# Nutrition in Cancer Care (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about nutrition before, during, and after cancer treatment. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Basic Principles of Nutrition in Patients With Cancer

The nutrition status of patients with cancer can vary at presentation and through the continuum of cancer care. Many patients experience unintentional weight loss leading to a diagnosis of cancer.[1,2] Studies have reported malnutrition in 30% to 85% of patients with cancer.[3,4] In addition, malnutrition increases treatment toxicities, diminishes quality of life, and accounts for 10% to 20% of mortality in patients with cancer.[5][Level of evidence: IV] Because there has previously been no universal definition of malnutrition, reports of malnutrition occurrence vary and may be underreported or overreported in different populations. Historically, weight loss, low body mass index (BMI), and serum albumin levels have been used as surrogate markers for malnutrition.[6,7]

Emerging evidence supports that loss of lean body mass (sarcopenia) in patients with cancer is an independent risk factor for poorer outcomes, and that in the setting of obesity, unlike in other diseases where weight loss may be welcomed, inappropriate loss of weight may lead to loss of muscle mass and poorer outcomes.[1,2,8,9] However, there is no universal definition of sarcopenia, and there are no simple methods to identify the condition, limiting application in clinical practice.[10]

The leading nutrition societies of the United States and Europe have developed consensus guidelines regarding standardized definitions of malnutrition, and the U.S. societies have developed criteria for assessment of malnutrition including weight loss.[7,11,12]

### Malnutrition

In 2010, the American Society for Parenteral and Enteral Nutrition (ASPEN) and the European Society for Clinical Nutrition and Metabolism published their proposed etiology-based definitions of malnutrition. These have been accepted by both groups and the Academy of Nutrition and Dietetics (the Academy).[7,11,13] The definitions and characteristics of malnutrition have also been accepted by the Academy’s Oncology Nutrition Evidence Analysis Library Work Group.[14]

Etiology-based definitions of malnutrition include the following:

- Starvation-related malnutrition: pure chronic starvation (e.g., anorexia nervosa).
- Chronic disease–related malnutrition (e.g., organ failure, pancreatic cancer, rheumatoid arthritis, and sarcopenic obesity, resulting in mild to moderate inflammation).
- Acute disease–related or injury-related malnutrition (e.g., major infection, burns, trauma, and closed head injury, resulting in moderate to severe inflammation).

In 2012, ASPEN and the Academy released a joint statement regarding assessment of malnutrition.[12] The statement serves as a guide for nutrition assessment, including nutrition-focused physical assessment, to determine nutrition status. The assessment takes into consideration that obesity may mask malnutrition and that weight and BMI alone are not good surrogates for nutrition status.[13] The consensus statement provides the criteria for evaluating each of the following six potential indicators of malnutrition, with the recommendation that if two or more characteristics are present, the diagnosis of malnutrition is warranted.

- Insufficient energy intake.
- Weight loss.
- Loss of muscle mass.
- Loss of subcutaneous fat.
- Localized or generalized fluid accumulation that may sometimes mask weight loss.
- Diminished functional status as measured by hand grip strength.

### Significant Weight Loss

Weight loss is often used as a surrogate for malnutrition. It has been correlated with adverse outcomes, including increased incidence and severity of treatment side effects and increased risk of infection, thereby reducing chances for survival.[15] Weight loss has been used as an indicator of poor prognosis in cancer patients.[16] One limitation of using weight loss as a surrogate for malnutrition is that it does not take into account the time course of the weight loss or the type of tissue loss.[7] In addition, weight may be affected by fluid shifts and may represent changes in hydration status, edema, or ascites rather than actual changes in fat and lean body mass.

The major nutrition societies in the United States have published criteria for the evaluation of weight loss over time and classifications as moderate or severe [12] (see Table 1). It is important that changes in weight be evaluated in the context of other clinical characteristics of underhydration or overhydration.

Table 1. Interpretation of Adult Weight Loss^a^

Time | % Weight Loss for Non-Severe (Moderate) Malnutrition | % Weight Loss for Severe Malnutrition
1 week | 1–2 | >2
1 month | 5 | >5
3 months | 7.5 | >7.5
6 months | 10 | >10
1 year | 20 | >20

^a^Adapted from White et al.[12]

### Anorexia and Cachexia

Anorexia, the loss of appetite or desire to eat, is typically present in 15% to 25% of all patients with cancer at diagnosis and may also occur as a side effect of treatments or related to the tumor itself. In an observational study of patients in outpatient clinics, anorexia was reported by 26% of patients receiving chemotherapy.[17] Anorexia can be exacerbated by chemotherapy and radiation therapy side effects such as taste and smell changes, nausea, and vomiting. Surgical procedures, including esophagectomy and gastrectomy, may produce early satiety, a premature feeling of fullness.[18] Depression, loss of personal interests or hope, and anxious thoughts may be enough to bring about anorexia and result in malnutrition.[19] Anorexia is an almost-universal symptom in individuals with widely metastatic disease [20,21] because of physiologic alterations in metabolism during carcinogenesis.

Anorexia can hasten the course of cachexia,[19] a progressive wasting syndrome evidenced by weakness and a marked and progressive loss of body weight, fat, and muscle. It can develop in individuals who have adequate protein and calorie intake but have primary cachexia whereby tumor-related factors prevent maintenance of fat and muscle. Patients with diseases of the gastrointestinal tract are particularly at risk of developing anorexia. For more information, see the Tumor metabolism section.

### Sarcopenia

Sarcopenia is the condition of severe muscle depletion.[1] The importance of lean body mass is shown in studies of sarcopenia in cancer. A meta-analysis of 38 studies found that a low skeletal muscle index at cancer diagnosis was associated with worse survival in patients with solid tumors.[8] Other studies have also reported poorer overall survival and increased chemotherapy toxicity in patients with sarcopenia.[1,2,9] Sarcopenic obesity may represent a chronic low-level inflammatory state that, as with disease-related malnutrition, often limits the effectiveness of nutrition interventions and requires successful treatment of the underlying disease or condition.[11] Sarcopenia is associated with increased toxicity of treatment and therefore treatment interruptions and dose reductions. It is reported to occur in 50% of patients with advanced cancer.[22-24]

Sarcopenic obesity is the presence of sarcopenia in individuals with a high BMI (≥25 kg/m^2^), often precipitated by the loss of skeletal muscle and gain of adipose tissue. Sarcopenic obesity is an independent risk factor for poor prognosis.[1,25,26]

It is important to identify and anticipate malnutrition and other nutrition impact symptoms early. (Nutrition impact symptoms are a range of side effects of cancer and cancer treatment that impede oral intake, e.g., alterations in taste and smell, mucositis, dysphagia, stomatitis, nausea, vomiting, diarrhea, constipation, malabsorption, pain, depression, and anxiety.) Nutrition intervention improves outcomes by helping a patient do the following:[4,6,16,22,27-29]

- Maintain weight.
- Maintain the ability to stay on the intended treatment regimen with fewer changes.
- Improve quality of life.
- Produce better surgical outcomes.

It is suggested that the treating clinician assess baseline nutrition status and be aware of the possible implications of the various therapies. Patients receiving aggressive cancer therapies typically need aggressive nutrition management. For more information, see the Nutrition Screening and Assessment section.

In this summary, unless otherwise stated, evidence and practice issues as they relate to adults are discussed. The evidence and application to practice related to children may differ significantly from information related to adults. When specific information about the care of children is available, it is summarized under its own heading.

### References

Martin L, Birdsell L, Macdonald N, et al.: Cancer cachexia in the age of obesity: skeletal muscle depletion is a powerful prognostic factor, independent of body mass index. J Clin Oncol 31 (12): 1539-47, 2013.23530101
Prado CM, Baracos VE, McCargar LJ, et al.: Sarcopenia as a determinant of chemotherapy toxicity and time to tumor progression in metastatic breast cancer patients receiving capecitabine treatment. Clin Cancer Res 15 (8): 2920-6, 2009.19351764
Bozzetti F, Mariani L, Lo Vullo S, et al.: The nutritional risk in oncology: a study of 1,453 cancer outpatients. Support Care Cancer 20 (8): 1919-28, 2012.22314972
Hébuterne X, Lemarié E, Michallet M, et al.: Prevalence of malnutrition and current use of nutrition support in patients with cancer. JPEN J Parenter Enteral Nutr 38 (2): 196-204, 2014.24748626
Muscaritoli M, Arends J, Bachmann P, et al.: ESPEN practical guideline: Clinical Nutrition in cancer. Clin Nutr 40 (5): 2898-2913, 2021.33946039
Baldwin C, Spiro A, Ahern R, et al.: Oral nutritional interventions in malnourished patients with cancer: a systematic review and meta-analysis. J Natl Cancer Inst 104 (5): 371-85, 2012.22345712
Marian M, August DA: Prevalence of malnutrition and current use of nutrition support in cancer patient study. JPEN J Parenter Enteral Nutr 38 (2): 163-5, 2014.24748623
Shachar SS, Williams GR, Muss HB, et al.: Prognostic value of sarcopenia in adults with solid tumours: A meta-analysis and systematic review. Eur J Cancer 57: 58-67, 2016.26882087
Kazemi-Bajestani SM, Mazurak VC, Baracos V: Computed tomography-defined muscle and fat wasting are associated with cancer clinical outcomes. Semin Cell Dev Biol 54: 2-10, 2016.26343952
Beaudart C, McCloskey E, Bruyère O, et al.: Sarcopenia in daily practice: assessment and management. BMC Geriatr 16 (1): 170, 2016.27716195
Jensen GL, Mirtallo J, Compher C, et al.: Adult starvation and disease-related malnutrition: a proposal for etiology-based diagnosis in the clinical practice setting from the International Consensus Guideline Committee. JPEN J Parenter Enteral Nutr 34 (2): 156-9, 2010 Mar-Apr.20375423
White JV, Guenter P, Jensen G, et al.: Consensus statement: Academy of Nutrition and Dietetics and American Society for Parenteral and Enteral Nutrition: characteristics recommended for the identification and documentation of adult malnutrition (undernutrition). JPEN J Parenter Enteral Nutr 36 (3): 275-83, 2012.22535923
White JV, Guenter P, Jensen G, et al.: Consensus statement of the Academy of Nutrition and Dietetics/American Society for Parenteral and Enteral Nutrition: characteristics recommended for the identification and documentation of adult malnutrition (undernutrition). J Acad Nutr Diet 112 (5): 730-8, 2012.22709779
Levin R: Nutrition risk screening and assessment of the oncology patient. In: Leser M, Ledesma N, Bergerson S, et al., eds.: Oncology Nutrition for Clinical Practice. Oncology Nutrition Dietetic Practice Group, 2018, pp 25-32.
Vigano A, Watanabe S, Bruera E: Anorexia and cachexia in advanced cancer patients. Cancer Surv 21: 99-115, 1994.8565002 96157332
McMahon K, Decker G, Ottery FD: Integrating proactive nutritional assessment in clinical practices to prevent complications and cost. Semin Oncol 25 (2 Suppl 6): 20-7, 1998.9625379 98287061
Tong H, Isenring E, Yates P: The prevalence of nutrition impact symptoms and their relationship to quality of life and clinical outcomes in medical oncology patients. Support Care Cancer 17 (1): 83-90, 2009.18551322
Rivadeneira DE, Evoy D, Fahey TJ, et al.: Nutritional support of the cancer patient. CA Cancer J Clin 48 (2): 69-80, 1998 Mar-Apr.9522822 98183366
Bruera E: ABC of palliative care. Anorexia, cachexia, and nutrition. BMJ 315 (7117): 1219-22, 1997.9393230
Langstein HN, Norton JA: Mechanisms of cancer cachexia. Hematol Oncol Clin North Am 5 (1): 103-23, 1991.2026566 91224901
Tisdale MJ: Cancer cachexia. Anticancer Drugs 4 (2): 115-25, 1993.8490191 93257719
Academy of Nutrition and Dietetics Oncology Expert Work Group: Nutrition and the Adult Oncology Patient. Chicago, Ill: Academy of Nutrition and Dietetics Evidence Analysis Library, 2013.
Cushen SJ, Power DG, Ryan AM: Nutrition assessment in oncology. Top Clin Nutr 30 (1): 103-19, 2015.
de van der Schueren M, Elia M, Gramlich L, et al.: Clinical and economic outcomes of nutrition interventions across the continuum of care. Ann N Y Acad Sci 1321: 20-40, 2014.25123208
Prado CM, Lieffers JR, McCargar LJ, et al.: Prevalence and clinical implications of sarcopenic obesity in patients with solid tumours of the respiratory and gastrointestinal tracts: a population-based study. Lancet Oncol 9 (7): 629-35, 2008.18539529
Carneiro IP, Mazurak VC, Prado CM: Clinical Implications of Sarcopenic Obesity in Cancer. Curr Oncol Rep 18 (10): 62, 2016.27541923
Aapro M, Arends J, Bozzetti F, et al.: Early recognition of malnutrition and cachexia in the cancer patient: a position paper of a European School of Oncology Task Force. Ann Oncol 25 (8): 1492-9, 2014.24569913
Baldwin C, Weekes CE: Dietary counselling with or without oral nutritional supplements in the management of malnourished patients: a systematic review and meta-analysis of randomised controlled trials. J Hum Nutr Diet 25 (5): 411-26, 2012.22672102
Ravasco P, Monteiro-Grillo I, Vidal PM, et al.: Dietary counseling improves patient outcomes: a prospective, randomized, controlled trial in colorectal cancer patients undergoing radiotherapy. J Clin Oncol 23 (7): 1431-8, 2005.15684319

## Impediments to Adequate Nutrition

Influences on nutrition status and risk of malnutrition include the following:[1]

- Baseline nutrition status.
- Disease site.
- Stage of disease.
- Treatment approach.

Treatment approaches, including surgery, chemotherapy, and radiation therapy, can have a direct (mechanical) negative effect and/or an indirect (metabolic) negative effect on nutrition status. The success of anticancer therapy is affected by the patient’s nutrition status before and during treatment, which influences the patient’s ability to tolerate therapy.

Oral intake is impeded by the following nutrition impact symptoms:[2]

- Anorexia.
- Alterations in taste and smell.
- Mucositis.
- Dysphagia.
- Stomatitis.
- Nausea.
- Vomiting.
- Diarrhea.
- Constipation.
- Malabsorption.
- Pain.
- Depression.
- Anxiety.

Preexisting comorbidities may also play a role in the development of cancer, e.g., alcohol abuse (head and neck cancer) and obesity (breast or prostate cancer), or may increase the risk of malnutrition at presentation.[3,4]

### Tumor-Induced Effects on Nutrition Status

Tumors may have systemic or local effects that affect nutrition status, including hypermetabolism, malabsorption, dysmotility, and obstructions.[5]

#### Disease site

Nutrition complications are usually most notable and severe with tumors involving the digestive tract or head and neck, owing to mechanical obstruction or dysfunction. See Table 2 for common side effects of tumor locations.

Table 2. Common Side Effects Related to Tumor Location^a^

Common Side Effects | Tumor Location
| Head/Neck | Esophagus, Stomach | Pancreas, Liver, Small Intestine | Large Intestine
Dysphagia/odynophagia | X | X
Xerostomia | X
Taste changes | X
Early satiety | | X | X
Nausea/vomiting | | X | X
Abdominal pain | | X | X
Diarrhea/malabsorption | | X | X | X
Constipation/obstruction | | | X | X
Anorexia/weight loss | | X | X | X

^a^Adapted from McGuire,[6] Leser,[7] Gill,[8] Nguyen et al.,[9] and Petzel.[10]

#### Tumor metabolism

Nutrition status can be compromised in direct response to tumor-induced alterations in metabolism (i.e., cachexia). Tumor-induced weight loss occurs frequently in patients with solid tumors of the lung, pancreas, and upper gastrointestinal (GI) tract and less often in patients with breast cancer or lower GI cancer. Cachexia is also more common with more-advanced disease.

In 2011, an international group of experts developed a consensus definition of cachexia as “a multifactorial syndrome defined by an ongoing loss of skeletal muscle mass...that cannot be fully reversed by conventional nutrition support and leads to progressive functional impairment.”[11] They classified three stages of cachexia and provided diagnostic criteria:

- Precachexia: early signs (clinical and metabolic) that precede substantial weight loss.
- Cachexia: the presence of significant weight loss or sarcopenia in the absence of simple starvation.
  - Weight loss >5% over the past 6 months or
  - Body mass index <20 kg/m^2^ and degree of weight loss >2% or
  - Sarcopenia and any degree of weight loss >2%.
- Refractory cachexia: cachexia that is clinically refractory, usually associated with advanced-stage cancer or rapid progression of disease that is unresponsive to treatment.

Although anorexia may also be present, the energy deficit alone does not explain the pathogenesis of cachexia. The etiology of cancer cachexia is not entirely understood, but several factors have been proposed.[12] Mediators, including cytokines, neuropeptides, neurotransmitters, and tumor-derived factors, are postulated to contribute to this syndrome.[13] Products of host tissues (e.g., tumor necrosis factor-alpha, interleukin-1, interleukin-6, interferon-gamma, and leukemia inhibitor factor) have been identified as mediators of this complex syndrome; also, tumor products (e.g., lipid-mobilizing factor and proteolysis-inducing factor [not established as definite in humans]) have a direct catabolic effect on host tissues.[14]

Altered metabolism of fats, proteins, and carbohydrates is evident in patients with cancer cachexia. Tumors may impair glucose uptake and glucose oxidation, leading to an increased glycolysis.[15] Weight loss can occur from a decrease in energy intake and/or an increase in energy expenditure. Although anorexia is a common symptom of patients with cancer, studies have shown that increased caloric intake, whether by the oral route or by supplementation with total parenteral nutrition, has failed to counteract the wasting process. This aberrant metabolic rate appears to be a direct response by the tumor and immune system to disrupt the pathways that regulate the body-weight regulation homeostasis loop.[13]

### Treatment-Induced Effects on Nutrition Status

Cancer treatments may cause acute and chronic effects. Nutrition intervention is based on symptom management. Patients who maintain good nutrition are more likely to tolerate the side effects of treatment. Adequate calories and protein can help maintain patient strength and prevent body tissues from further catabolism. Side effects of cancer treatments vary among patients, depending on the type, length, and dose of treatments and the type of cancer being treated (see Table 3). Cancer treatment has toxic effects on the GI tract, including the following:

- Nausea.
- Vomiting.
- Constipation.
- Diarrhea.
- Xerostomia.
- Mucositis.
- Dysphagia.
- Loss of appetite.

Table 3. Treatment-Induced Effects on Nutrition Status^a^

Effect | Treatment
| Chemotherapy | Radiation Therapy | Biotherapy | Hormone Therapy | Surgery
Dysphagia | X | X
Xerostomia | X | X
Mucositis | X | X
Taste changes | X | X
Early satiety | X | | | | X
Nausea/vomiting | X | X | X | X | X
Diarrhea | X | X | X | | X
Constipation | X | X | X | | X
Anorexia/weight loss | X | | X | | X
Weight gain | | | | X

^a^Adapted from Grant [16] and American Cancer Society.[17]

#### Chemotherapy and hormone therapy

Chemotherapy and hormone therapy can be used as single agents or in combination, depending on the disease type and patient’s health condition.[16,18] These agents are divided into several functional categories. For example, chemotherapy is a systemic treatment (not a localized treatment) that affects the whole body (not just a specific part) [19] and potentially causes more side effects when compared with localized treatments such as surgery and radiation therapy.

Common nutrition-related side effects include the following:

- Anorexia.
- Taste changes.
- Early satiety.
- Nausea.
- Vomiting.
- Mucositis/esophagitis.
- Diarrhea.
- Constipation.

Because cancer and the side effects of chemotherapy can greatly affect nutrition status, health care providers must anticipate possible problems and formulate a plan with the patient to prevent malnutrition and weight loss. Malnutrition and weight loss can affect a patient’s ability to regain health and acceptable blood counts between chemotherapy cycles; this can directly affect the patient’s ability to stay on treatment schedules, which is important for achieving a successful outcome. For more information, see the sections on Nutrition Screening and Assessment and Behavioral strategies for symptom management.

Patients receiving hormone suppression therapies are at risk of weight gain rather than weight loss. These patients may benefit from directed education to minimize weight gain and help reduce the risk of developing comorbidities associated with excess body weight.[20]

#### Radiation therapy

Radiation therapy causes localized symptoms. Some of the common nutrition-related side effects caused by irradiation include the following:[16]

- Changes in taste or ability to swallow.
- Nausea/vomiting.
- Changes in bowel movements (usually diarrhea).
- GI symptoms such as gas.

The side effects of radiation therapy depend on the area that is irradiated, total dose, fractionation, duration, and volume irradiated (see Table 4). Most side effects are acute, begin around the second or third week of treatment, and diminish 2 or 3 weeks after radiation therapy has been completed. Some side effects can be chronic and continue or occur after treatment has been completed.[21] For more information, see the Behavioral strategies for symptom management section.

Nutrition support during radiation therapy is vital. The effect of radiation therapy on healthy tissue in the treatment field can produce changes in normal physiologic function that may ultimately diminish a patient’s nutrition status by interfering with ingestion, digestion, or absorption of nutrients.

Many nutrition-related side effects result from radiation therapy. Quality of life and nutrition intake can be improved by managing these side effects through appropriate medical nutrition therapy and dietary modifications. For example, medications such as pilocarpine (Salagen) may be useful in treating the xerostomia that accompanies radiation therapy targeting the head and neck.[22] This medicine may reduce the need for artificial saliva agents or other oral comfort agents such as hard candy or sugarless gum.

Table 4. Radiation-Induced Effects on Nutrition Status by Treatment Site^a^

Treatment Site | Effect
| Xerostomia, mucositis, taste changes | Dysphagia, odynophagia, esophagitis | Nausea, vomiting | Diarrhea | Other acute | Late side effects
Brain | | X | X | | Loss of appetite | Dysphagia
Head and neck | X | X | | | Thick saliva | Trismus, dysphagia, xerostomia
Chest | | X | X | | Loss of appetite | Esophageal stenosis, fibrosis, or necrosis
Abdomen | | | X | X | | Chronic enteritis/colitis, intestinal stricture or obstruction
Pelvis and rectum | | | X | X

^a^Adapted from Grant (tables 11-14–11-16),[16] Romano,[23] and Harris et al.[24]

#### Surgery

For patients with most types of solid tumors, surgery is the only chance for a cure.[17] Although a tumor may be technically resectable, a meaningful recovery can depend on a patient’s preoperative nutrition status. Patients who are malnourished at the time of surgery are at higher risk of postoperative morbidity and mortality and longer hospital stays.[25,26] If time permits or if the surgical procedure may be delayed safely, steps can be taken to identify patients who are moderately to severely malnourished before surgery and to correct macronutrient and micronutrient deficiencies before surgery.[6,25] Choosing the best method to correct a nutrition deficiency depends on GI tract function; options include oral liquid nutrition supplements, and enteral or parenteral nutrition support. For more information, see the Nutrition Screening and Assessment section.

Surgical treatment can increase occurrence of or worsen malnutrition. Common side effects of surgery, especially to the GI tract or head and neck, include decreased appetite, decreased ability to take food by mouth, and early satiety, all of which can lead to worsening preexisting malnutrition or may cause previously adequately nourished patients to become malnourished after surgery.[26]

Depending on the procedure, surgery can cause mechanical or physiologic barriers to adequate nutrition, such as a short gut that results in malabsorption after bowel resection.[6] In addition to these mechanical barriers, surgery frequently leads to an immediate catabolic response and changes the nutrient requirements necessary for wound healing and recovery at a time when baseline needs and requirements are often not being met.[4]

For more information about approaches to nutrition intervention and the appropriate use of enteral and parenteral nutrition support, see the Nutrition support section.

#### Biotherapy

Biotherapy is treatment to boost the immune system to help enhance the body’s own response against cancer or to help repair normal cells damaged as a side effect of treatment.[18] Biotherapy includes growth factors, monoclonal antibodies, and vaccines. The symptoms of biotherapy that are most likely to impact nutrition status are fatigue, fever, nausea, vomiting, and diarrhea.[27]

#### Hemopoietic cell transplant (HCT)

Patients receiving HCT can have special nutrition requirements. Before cell transplant, patients receive high-dose chemotherapy and may be treated with total-body irradiation.[28,29] In addition to the medications used during transplant, these treatments frequently result in nutrition-related side effects, including mucositis and significant diarrhea, which may affect the ability to consume an adequate diet. Patients may also experience acute or chronic graft-versus-host disease (GVHD). GVHD may target the GI tract, liver, or skin, altering the body’s ability to ingest and process adequate calories and protein.[28]

The goal of nutrition support is to maintain adequate nutrition status and protein stores. The American Society for Parenteral and Enteral Nutrition recommends that patients undergoing HCT who are malnourished and expected to be unable to ingest or absorb adequate nutrients for a prolonged period of time (>7–14 days) receive nutrition support; if a patient has a functioning GI tract, enteral nutrition is recommended.[28,29]

In addition, patients undergoing transplant are at very high risk of neutropenia, an abnormally small number of neutrophils in the blood that increases susceptibility to multiple infections. To reduce the risk of infections related to HCT, patients can receive dietary counseling regarding safe food handling and avoidance of foods that may pose an infection risk.[28,29] For more information about diet for immunocompromised patients, see the Reducing Risk of Foodborne Illness in Cancer Patients section.

### References

Levin R: Nutrition risk screening and assessment of the oncology patient. In: Leser M, Ledesma N, Bergerson S, et al., eds.: Oncology Nutrition for Clinical Practice. Oncology Nutrition Dietetic Practice Group, 2018, pp 25-32.
Wojtaszek CA, Kochis LM, Cunningham RS: Nutrition impact symptoms in the oncology patient. Oncology Issues 17 (2): 15-7, 2002.
Martin L, Birdsell L, Macdonald N, et al.: Cancer cachexia in the age of obesity: skeletal muscle depletion is a powerful prognostic factor, independent of body mass index. J Clin Oncol 31 (12): 1539-47, 2013.23530101
Huhmann M: Nutrition management of the surgical oncology patient. In: Leser M, Ledesma N, Bergerson S, et al., eds.: Oncology Nutrition for Clinical Practice. Oncology Nutrition Dietetic Practice Group, 2018, pp 135-42.
August DA, Huhmann M: Nutrition support of the cancer patient. In: Ross AC, Caballero B, Cousins RJ, et al., eds.: Modern Nutrition in Health and Disease. 11th ed. Wolters Kluwer Health/Lippincott Williams & Wilkins, 2014, pp 1194-1213.
McGuire M: Nutritional care of surgical oncology patients. Semin Oncol Nurs 16 (2): 128-34, 2000.10842782 20301599
Leser M: Medical nutrition therapy for esophageal cancer. In: Leser M, Ledesma N, Bergerson S, et al., eds.: Oncology Nutrition for Clinical Practice. Oncology Nutrition Dietetic Practice Group, 2018, pp 181-6.
Gill C: Nutrition management for cancers of the gastrointestinal tract. In: Leser M, Ledesma N, Bergerson S, et al., eds.: Oncology Nutrition for Clinical Practice. Oncology Nutrition Dietetic Practice Group, 2018, pp 187-200.
Nguyen A, Nadler E: Medical nutrition therapy for head and neck cancer. In: Leser M, Ledesma N, Bergerson S, et al., eds.: Oncology Nutrition for Clinical Practice. Oncology Nutrition Dietetic Practice Group, 2018, pp 201-8.
Petzel MQB: Medical nutrition therapy for pancreatic and bile duct cancer. In: Leser M, Ledesma N, Bergerson S, et al., eds.: Oncology Nutrition for Clinical Practice. Oncology Nutrition Dietetic Practice Group, 2018, pp 219-28.
Fearon K, Strasser F, Anker SD, et al.: Definition and classification of cancer cachexia: an international consensus. Lancet Oncol 12 (5): 489-95, 2011.21296615
Tisdale MJ: Pathogenesis of cancer cachexia. J Support Oncol 1 (3): 159-68, 2003 Sep-Oct.15334872
Ramos EJ, Suzuki S, Marks D, et al.: Cancer anorexia-cachexia syndrome: cytokines and neuropeptides. Curr Opin Clin Nutr Metab Care 7 (4): 427-34, 2004.15192446
Strasser F, Bruera ED: Update on anorexia and cachexia. Hematol Oncol Clin North Am 16 (3): 589-617, 2002.12170570
Gambardella A, Tortoriello R, Tagliamonte MR, et al.: Metabolic changes in elderly cancer patients after glucose ingestion. The role of tumor necrosis factor-alpha. Cancer 79 (1): 177-84, 1997.8988743 97142721
Grant BL: Nutritional effects of cancer treatment: chemotherapy, biotherapy, hormone therapy and radiation therapy. In: Leser M, Ledesma N, Bergerson S, et al., eds.: Oncology Nutrition for Clinical Practice. Oncology Nutrition Dietetic Practice Group, 2018, pp 97-114.
American Cancer Society: Cancer Surgery. Atlanta, Ga: American Cancer Society, 2019. Available online (https://www.cancer.org/cancer/managing-cancer/treatment-types/surgery.html). Last accessed May 15, 2024.
LeFebvre KB, Stiver W: Overview of cancer and cancer treatment. In: Polovich M, Olsen M, LeFebvre KB, eds.: Chemotherapy and Biotherapy Guidelines and Recommendations for Practice. 4th ed. Oncology Nursing Society, 2014, pp 1-16.
Fishman M, Mrozek-Orlowski M, eds.: Cancer Chemotherapy Guidelines and Recommendations for Practice. Oncology Nursing Press, 1999.
Olsen M, Davis PF, Douglas TT, et al.: Side effects of cancer therapy. In: Polovich M, Olsen M, LeFebvre KB, eds.: Chemotherapy and Biotherapy Guidelines and Recommendations for Practice. 4th ed. Oncology Nursing Society, 2014, pp 171-436.
Donaldson SS: Nutritional consequences of radiotherapy. Cancer Res 37 (7 Pt 2): 2407-13, 1977.861954 77183442
Scarantino C, LeVeque F, Swann RS, et al.: Effect of pilocarpine during radiation therapy: results of RTOG 97-09, a phase III randomized study in head and neck cancer patients. J Support Oncol 4 (5): 252-8, 2006.16724649
Romano MC: General symptom management: nutritional issues. In: Iwamoto RR, Haas ML, Gosselin TK, eds.: Manual for Radiation Oncology Nursing Practice and Education. 4th ed. Oncology Nursing Society, 2012, pp 80-94.
Harris DJ, Witt ME: Site-specific management: head and neck. In: Iwamoto RR, Haas ML, Gosselin TK, eds.: Manual for Radiation Oncology Nursing Practice and Education. 4th ed. Oncology Nursing Society, 2012, pp 122-44.
Huhmann MB, August DA: Perioperative nutrition support in cancer patients. Nutr Clin Pract 27 (5): 586-92, 2012.22875752
Shim H, Cheong JH, Lee KY, et al.: Perioperative nutritional status changes in gastrointestinal cancer patients. Yonsei Med J 54 (6): 1370-6, 2013.24142640
American Cancer Society Website. Atlanta, Ga: American Cancer Society, 2024. Available online (https://www.cancer.org/). Last accessed May 15, 2024.
August DA, Huhmann MB; American Society for Parenteral and Enteral Nutrition (A.S.P.E.N.) Board of Directors: A.S.P.E.N. clinical guidelines: nutrition support therapy during adult anticancer treatment and in hematopoietic cell transplantation. JPEN J Parenter Enteral Nutr 33 (5): 472-500, 2009 Sep-Oct.19713551
Macris PC: Medical nutrition therapy for hematopoietic cell transplantation. In: Leser M, Ledesma N, Bergerson S, et al., eds.: Oncology Nutrition for Clinical Practice. Oncology Nutrition Dietetic Practice Group, 2018, pp 157-64.

## Nutrition Screening and Assessment

Optimizing nutrition for patients with cancer involves early detection of malnutrition or risk of malnutrition so that intervention may be initiated in the early stages of disease or treatment. The goal of nutrition screening is to rapidly identify patients who are at risk of developing malnutrition and refer them to a health care professional, ideally a registered dietitian, who can perform a complete nutrition assessment and implement a nutrition care plan.[1,2]

There are no standard definitions or indices of malnutrition. Historically, loss of weight or body mass index (BMI), low BMI, and low serum protein (e.g., albumin) have been used to identify patients with malnutrition. Without more context, these characteristics are not acceptable measures by which to determine malnutrition.[3-5] Weight changes alone cannot be used to determine nutrition status because weight changes do not account for fluid changes (dehydration, ascites, and edema) or disproportionate loss of lean body mass.[4,6] Likewise, evidence demonstrates that BMI is deceiving because it does not account for body composition (lean body mass vs. fat mass), and many patients with cancer may present with a normal or high body weight/BMI but have severe muscle depletion (i.e., sarcopenia).[7] The use of albumin, which is now recognized as being significantly influenced by inflammation, is also a poor measure of nutrition status and more likely suggestive of disease severity, not nutrition status.[4,8] Standardized definitions and cutoff points that designate malnutrition or cachexia are being developed; however, the true prevalence of malnutrition in the oncology population is unknown.

A growing body of literature examines the prevalence of malnutrition in cancer patients with obesity. In a study of clinical data obtained from 1,469 patients with metastatic primary cancers, 41.9% were identified as overweight or obese.[9] Upon assessment, 50% were at risk of being malnourished, and 12% were already malnourished at presentation. Malnutrition, even in the presence of obesity, has been found to be an independent predictor of survival,[9] with patients presenting with sarcopenic obesity having the poorest prognosis.[10] Therefore, these data suggest that the assessment of malnutrition among patients of every weight status is important.

Obesity has been shown to increase the risk of cancer recurrence, and it negatively impacts overall survival.[1,11,12] The prevalence of obesity is higher in adult cancer survivors than in those without a cancer history. Cancer survivors with the highest rates of increasing obesity are colorectal and breast cancer survivors and non-Hispanic Black individuals.[13] Emerging evidence supports the efficacy of intentional weight loss in overweight or obese cancer patients and survivors to reduce the risk of recurrent disease and improve prognosis, particularly among breast cancer patients.[14-16] Similar research is under way for patients with other obesity-related cancers.

### Screening

Early recognition of nutrition-related issues is necessary for appropriate nutrition management of cancer patients. Nutrition screening can be performed with a validated tool before treatment begins and at regular intervals over the course of treatment.

Nutrition screening can be a simple process that may be completed by hospital staff or members of the community/ambulatory health care team, with the goal of early identification of individuals with or at risk of malnutrition.[1,5,17,18] Leading nutrition organizations—including the American Society for Parenteral and Enteral Nutrition, the European Society for Clinical Nutrition and Metabolism, and the Academy of Nutrition and Dietetics (the Academy)—recommend screening patients in both acute and ambulatory settings for risk of malnutrition.[8,17,18] The Academy’s Oncology Nutrition Dietetic Practice Group, the Oncology Nursing Society, and the Association of Community Cancer Centers recommend screening all patients with cancer in the outpatient setting.[1,5] Because of a mandate from The Joint Commission that all patients admitted to the hospital undergo nutrition screening,[19] most acute care facilities have a screening system set up,[17] although such a system may not be specific to or validated in the oncology setting.

In the outpatient oncology setting, it is recommended that patients be screened initially before treatment begins and rescreened at planned intervals. Screening can most often coincide with the patient’s treatment schedule, such as weekly during radiation therapy and as frequently as every 2 to 3 weeks during chemotherapy, before surgery, and at follow-up visits after completion of treatment or surgical recovery.[1,2,5]

The following five screening tools are validated for use in oncology:[5,20-24]

- The Malnutrition Screening Tool for Cancer Patients.
- The Malnutrition Universal Screening Tool.
- The Malnutrition Screening Tool (MST).
- The Patient-Generated Subjective Global Assessment (PG-SGA).
- The NUTRISCORE tool.

Only the MST and the PG-SGA have been validated for use in both inpatient and outpatient oncology settings. Several studies have validated use of the abridged PG-SGA (abPG-SGA) or short-form PG-SGA (PG-SGAsf), each of which is simply the section of the PG-SGA completed by the patient.[25,26]

The Nutrition Risk Screening-2002 has not been validated in the oncology setting, but it has been used in several studies of oncology patients. Scores are correlated to general outcomes associated with malnutrition, such as hospital length of stay, complications, and mortality.[2,3,18,27,28]

The NUTRISCORE tool utilizes the MST as a base but has additional items, including tumor location and treatment, that help improve sensitivity (97.3% vs. 84%) and specificity (95.9% vs. 85.6%). The authors used the PG-SGA as the reference for validation in the outpatient oncology setting, also finding that it took less time to complete the NUTRISCORE than it did to complete the PG-SGA.[24] When choosing a screening method, consider who will perform the screen, how much time may be devoted to the process, and what the process will be for referring the patient for a full nutrition assessment.[1] It is also ideal to use a validated tool. The two tools validated for both inpatient and outpatient in oncology settings are presented in further detail below.

#### MST

The MST is a short questionnaire comprising two questions. Depending on the answers, patients are stratified into two categories: at risk or not at risk.[23] The advantage of the MST is that it is quick to perform and may be completed by health care or administrative staff. It is well validated and consistently shows high sensitivity and specificity in identifying patients at risk of malnutrition.[29]

In screening, it is important to use a validated tool and to consider the needs of the clinical practice. In centers where a registered dietitian is available, the MST may be the screening tool of choice because it is quick and can be performed by many members of the office and practice staff. Patients found to be at risk may be referred to the dietitian for further assessment.

#### PG-SGA

The PG-SGA (http://pt-global.org/?page_id=13) is the most commonly accepted tool for screening and assessment, backed by many studies and validated in both inpatient and outpatient oncology settings.[2,29] It is an in-depth tool, and most of the items are completed by the patient. There are four sections comprising 17 data points evaluating the following:

- Weight/weight history.
- Food intake.
- Symptoms.
- Activities/function.

The remainder of the PG-SGA is completed by a health care practitioner, accounting for information about disease and metabolic demand and the completion of a physical examination. The abPG-SGA and PG-SGAsf use only the section completed by the patient. Responses are then scored, and patients are stratified into the following four nutrition triage categories:[1,5]

- No intervention.
- Education by registered dietitian or other clinician.
- Intervention by registered dietitian.
- Critical need for improved symptom management.

The benefit of the PG-SGA (PG-SGAsf) is that it collects clinical information that can be helpful in the nutrition assessment. The drawback is that the PG-SGA takes more time to administer and requires a trained health care practitioner to complete the physical assessment portion. With validation of the short form, the need for physical examination is eliminated, and the practitioner’s administration time is reduced.

In practices where a registered dietitian is not available, the PG-SGAsf may be more appropriate because it helps better determine which patients may receive sufficient information from the nurse, advanced-practice provider, or physician and which patients would best be referred to a registered dietitian for more in-depth assessment and intervention.

### Assessment

Nutrition assessment is a comprehensive approach to evaluating and diagnosing nutrition problems and designing interventions.[17] A full nutrition assessment involves evaluation of the following six components:

- Food- and nutrition-related history.
- Anthropometric measurements.
- Biochemical data, medical tests, and procedures.
- Nutrition-focused physical assessment.
- Medical history.
- Treatment plan.

The assessment of anthropometric measurements evaluates weight loss, takes into account the time frame of weight loss, and is considered in the context of physical findings such as dehydration or fluid retention. Evaluation of food- and nutrition-related history ideally involves a dietitian obtaining a diet history and comparing intake with the patient’s calculated energy needs.[2,6] The nutrition-focused physical assessment evaluates loss of muscle mass and subcutaneous fat, fluid accumulation, and potential micronutrient deficiencies. The physical examination of the following areas determines loss of subcutaneous fat or muscle:

Subcutaneous fat loss
- Orbit.
- Upper arm.
- Thoracic and lumbar regions.

Subcutaneous muscle loss
- Temple.
- Clavicle.
- Clavicle and acromion.
- Scapula.
- Dorsal hand.
- Patella.
- Anterior thigh.
- Posterior calf.

Within the nutrition assessment, the following factors are considered in diagnosing malnutrition:[8]

- Insufficient energy intake.
- Weight loss.
- Loss of muscle mass.
- Loss of subcutaneous fat.
- Localized or generalized fluid accumulation.
- Diminished functional status (e.g., grip strength).

In addition to the issues described above, the oncology nutrition assessment also takes into account the following:[5]

- Tumor location (current or anticipated mechanical function impairment).
- Current side effects/symptoms.
- Anticipated treatment/side effects.
- Anticipated duration of symptoms.
- Intent of treatment.

The goal of an oncology nutrition assessment is to collect the information necessary to determine current or anticipated nutrition issues and to formulate a plan with the patient, caregivers, and other members of the health care team involved with nutrition interventions. Additionally, this multidisciplinary team approach may also include metabolic, pharmacologic, and functional interventions to address and prevent the identified or anticipated nutrition issues.[1,5,30]

### References

Levin R: Nutrition risk screening and assessment of the oncology patient. In: Leser M, Ledesma N, Bergerson S, et al., eds.: Oncology Nutrition for Clinical Practice. Oncology Nutrition Dietetic Practice Group, 2018, pp 25-32.
Cushen SJ, Power DG, Ryan AM: Nutrition assessment in oncology. Top Clin Nutr 30 (1): 103-19, 2015.
Baldwin C, Spiro A, Ahern R, et al.: Oral nutritional interventions in malnourished patients with cancer: a systematic review and meta-analysis. J Natl Cancer Inst 104 (5): 371-85, 2012.22345712
Marian M, August DA: Prevalence of malnutrition and current use of nutrition support in cancer patient study. JPEN J Parenter Enteral Nutr 38 (2): 163-5, 2014.24748623
Academy of Nutrition and Dietetics Oncology Expert Work Group: Nutrition and the Adult Oncology Patient. Chicago, Ill: Academy of Nutrition and Dietetics Evidence Analysis Library, 2013.
Aapro M, Arends J, Bozzetti F, et al.: Early recognition of malnutrition and cachexia in the cancer patient: a position paper of a European School of Oncology Task Force. Ann Oncol 25 (8): 1492-9, 2014.24569913
de van der Schueren M, Elia M, Gramlich L, et al.: Clinical and economic outcomes of nutrition interventions across the continuum of care. Ann N Y Acad Sci 1321: 20-40, 2014.25123208
White JV, Guenter P, Jensen G, et al.: Consensus statement of the Academy of Nutrition and Dietetics/American Society for Parenteral and Enteral Nutrition: characteristics recommended for the identification and documentation of adult malnutrition (undernutrition). J Acad Nutr Diet 112 (5): 730-8, 2012.22709779
Gioulbasanis I, Martin L, Baracos VE, et al.: Nutritional assessment in overweight and obese patients with metastatic cancer: does it make sense? Ann Oncol 26 (1): 217-21, 2015.25361991
Gonzalez MC, Pastore CA, Orlandi SP, et al.: Obesity paradox in cancer: new insights provided by body composition. Am J Clin Nutr 99 (5): 999-1005, 2014.24572565
Rock CL, Doyle C, Demark-Wahnefried W, et al.: Nutrition and physical activity guidelines for cancer survivors. CA Cancer J Clin 62 (4): 243-74, 2012 Jul-Aug.22539238
Daniel CR, Shu X, Ye Y, et al.: Severe obesity prior to diagnosis limits survival in colorectal cancer patients evaluated at a large cancer centre. Br J Cancer 114 (1): 103-9, 2016.26679375
Greenlee H, Shi Z, Sardo Molmenti CL, et al.: Trends in Obesity Prevalence in Adults With a History of Cancer: Results From the US National Health Interview Survey, 1997 to 2014. J Clin Oncol 34 (26): 3133-40, 2016.27458295
Rock CL, Byers TE, Colditz GA, et al.: Reducing breast cancer recurrence with weight loss, a vanguard trial: the Exercise and Nutrition to Enhance Recovery and Good Health for You (ENERGY) Trial. Contemp Clin Trials 34 (2): 282-95, 2013.23266440
Rock CL, Flatt SW, Byers TE, et al.: Results of the Exercise and Nutrition to Enhance Recovery and Good Health for You (ENERGY) Trial: A Behavioral Weight Loss Intervention in Overweight or Obese Breast Cancer Survivors. J Clin Oncol 33 (28): 3169-76, 2015.26282657
Rock CL, Pande C, Flatt SW, et al.: Favorable changes in serum estrogens and other biologic factors after weight loss in breast cancer survivors who are overweight or obese. Clin Breast Cancer 13 (3): 188-95, 2013.23375717
Mueller C, Compher C, Ellen DM, et al.: A.S.P.E.N. clinical guidelines: Nutrition screening, assessment, and intervention in adults. JPEN J Parenter Enteral Nutr 35 (1): 16-24, 2011.21224430
Kondrup J, Allison SP, Elia M, et al.: ESPEN guidelines for nutrition screening 2002. Clin Nutr 22 (4): 415-21, 2003.12880610
The Joint Commission: 2017 Comprehensive Accreditation Manual for Hospitals (CAMH). Joint Commission Resources, 2016.
Isenring E, Cross G, Daniels L, et al.: Validity of the malnutrition screening tool as an effective predictor of nutritional risk in oncology outpatients receiving chemotherapy. Support Care Cancer 14 (11): 1152-6, 2006.16622648
Ottery FD: Rethinking nutritional support of the cancer patient: the new field of nutritional oncology. Semin Oncol 21 (6): 770-8, 1994.7992092 95084205
Bauer J, Capra S, Ferguson M: Use of the scored Patient-Generated Subjective Global Assessment (PG-SGA) as a nutrition assessment tool in patients with cancer. Eur J Clin Nutr 56 (8): 779-85, 2002.12122555 22117307
Ferguson M, Capra S, Bauer J, et al.: Development of a valid and reliable malnutrition screening tool for adult acute hospital patients. Nutrition 15 (6): 458-64, 1999.10378201
Arribas L, Hurtós L, Sendrós MJ, et al.: NUTRISCORE: A new nutritional screening tool for oncological outpatients. Nutrition 33: 297-303, 2017.27751743
Vigano AL, di Tomasso J, Kilgour RD, et al.: The abridged patient-generated subjective global assessment is a useful tool for early detection and characterization of cancer cachexia. J Acad Nutr Diet 114 (7): 1088-98, 2014.24462323
Gabrielson DK, Scaffidi D, Leung E, et al.: Use of an abridged scored Patient-Generated Subjective Global Assessment (abPG-SGA) as a nutritional screening tool for cancer patients in an outpatient setting. Nutr Cancer 65 (2): 234-9, 2013.23441610
Kondrup J, Rasmussen HH, Hamberg O, et al.: Nutritional risk screening (NRS 2002): a new method based on an analysis of controlled clinical trials. Clin Nutr 22 (3): 321-36, 2003.12765673
Orell-Kotikangas H, Österlund P, Saarilahti K, et al.: NRS-2002 for pre-treatment nutritional risk screening and nutritional status assessment in head and neck cancer patients. Support Care Cancer 23 (6): 1495-502, 2015.25370893
Leuenberger M, Kurmann S, Stanga Z: Nutritional screening tools in daily clinical practice: the focus on cancer. Support Care Cancer 18 (Suppl 2): S17-27, 2010.20087607
Huhmann MB, August DA: Review of American Society for Parenteral and Enteral Nutrition (ASPEN) Clinical Guidelines for Nutrition Support in Cancer Patients: nutrition screening and assessment. Nutr Clin Pract 23 (2): 182-8, 2008 Apr-May.18390787

## Nutrition Therapy

### Goals of Nutrition Therapy

The goals of medical nutrition therapy are to do the following:[1]

- Address current cancer- and treatment-related issues.
- Minimize treatment-related side effects.
- Anticipate and manage acute, delayed, and late-occurring side effects of cancer and/or cancer treatment.

Goals must be individualized for each patient on the basis of the following:

- Nutrition status.
- Type and stage of disease.
- Comorbid conditions.
- Overall medical treatment plan.

Decisions about the best approach for therapy are informed by symptom severity and function of the gastrointestinal (GI) tract. Treatment could include multiple strategies based on these factors.

Nutrition goals during and after cancer therapy are integrated with goals related to nutrition status and the presence of malnutrition.[2] Table 5 summarizes nutrition goals on the basis of nutrition status, malnutrition as defined by current guidelines,[3] and stage of cancer treatment.

A healthy diet with an emphasis on plant-based foods, regular physical activity, and achievement of a healthy weight has been recommended for all patients after cancer treatment on the basis of extensive reviews of the evidence.[4,5] Evidence-based guidelines for a healthy diet for cancer risk reduction are available online from the American Institute for Cancer Research (https://www.aicr.org/cancer-prevention/healthy-eating/) (AICR) and the American Cancer Society (https://www.cancer.org/healthy/eat-healthy-get-active.html) (ACS).

Table 5. Nutrition Goals During Treatment^a^

Weight/Nutrition Status | During Treatment
Healthy weight and nutrition status | Maintain lean body mass
Healthy weight and nutrition status | Maintain healthy weight
Malnutrition
– Acute disease related | Support vital organ function
– Acute disease related | Preserve host response though acute episode
– Acute disease related | May have increased energy and protein requirements
– Chronic disease related | Maintain and improve lean body mass and fat
Obesity (no malnutrition) | Maintain lean body mass
Obesity (no malnutrition) | Consider modest weight reduction (≤2 lbs/wk)

^a^Adapted from Hamilton et al.,[2] Kushi et al.,[4] and Rock et al.[6]

### Methods of Nutrition Therapy

Prompt and aggressive nutrition intervention is required for patients with precachexia or cancer cachexia. Intervention is more likely to be effective when started early. Interventions include an individualized approach to oral, enteral, and parenteral nutrition using evidence-based recommendations, guidelines, and program and regulatory standards.

The dietitian works with the patient, caregivers, and members of the health care team to (1) improve compliance and the effectiveness of pharmacotherapy interventions prescribed to manage cancer and cancer treatment–related symptoms; and (2) counsel patients about behavioral strategies to alleviate nutrition impact symptoms.[1]

#### Counseling by a registered dietitian

The registered dietitian/nutritionist is an integral member of the oncology team in hospital and ambulatory settings. The Association of Community Cancer Centers Cancer Program Guidelines [7] specify having a registered dietitian work with patients and their families, especially those at risk of developing nutrition problems. Registered dietitians work with the patient, family, and medical team to manage nutrition and hydration status and maintain optimal nutrition status across the continuum of care through appropriate screening, assessment, and intervention.[8]

The registered dietitian does the following:[8,9]

- Provides individualized care to each patient with nutrition- and diet-related needs.
- Incorporates current research and utilizes evidence-based nutrition practice.
- Collaborates with the medical team to ensure integration of care with the overall treatment plan during active treatment and into survivorship.

Registered dietitians also serve as a resource for patients and communities, providing education related to reducing cancer risk and the risk of recurrence.[8,9] Intensive, individualized nutrition counseling requires nutrition professionals with specific experience in oncology.[9,10]

A systematic review of randomized controlled trials led to the recommendation that patients be referred for nutrition counseling because of strong evidence of its beneficial effects on the prevention and reduction of malnutrition.[11] Evidence also suggests that dietitian-led intervention is associated with increased survival.[12][Level of evidence: I][13]

A randomized controlled trial of 328 patients at a single institution in China assessed the inclusion of a dietitian and psychologist as part of the interdisciplinary team versus the standard of care. The standard of care team included the medical oncologist and oncology nurse, with referral, as needed, to a dietitian and/or psychologist. The patients in the intervention group met with the interdisciplinary team before starting chemotherapy and had follow-up visits at defined intervals throughout treatment until the time of death. Nutrition intervention (diet counseling and side-effect management, with or without oral nutrition supplements and tube feeding) and follow-up by the dietitian was standardized, based on initial nutrition risk screening scores. All participants received chemotherapy per standardized guidelines (including National Comprehensive Cancer Network), and there were no significant differences in patient demographics. Improvement in overall survival (median, 14.8 months vs. 11.9 months) occurred despite no statistically significant difference in progression-free survival. Secondary analysis also showed significant improvements in nutrition assessment scores at 9 weeks.[12][Level of evidence: I]

Another randomized controlled trial studied 383 patients newly diagnosed with primary adenocarcinoma colorectal cancer (CRC) in Oslo, Norway (CRC-NORDIET (https://www.cancer.gov/clinicaltrials/NCT01570010) study). An intervention group (n = 192) received tailored dietary counseling, discount cards for healthy foods, delivery of free food, and an invitation to attend a cooking course. A control group (n = 191) received no dietary intervention. At 6 months, the intervention group had a weight gain and fat mass gain that were 0.7 kg and 0.6 kg less than those of the control group, respectively (P = .020 and P = .019). At both 6 and 12 months, the intervention group had a lower increase in the ratio of fat mass to fat-free mass compared with the control group (P = .025 and P = .021, respectively). The findings suggest that this type of focused and tailored dietary intervention may contribute to a more favorable body composition profile for patients with CRC.[14]

In a study of patients with unresectable pancreatic adenocarcinoma, participants had a weekly phone call with a registered dietitian for 8 weeks to discuss diet and management of disease-related side effects. They were also given oral nutritional supplements. Median survival was found to be significantly longer in weight-stable versus weight-losing subjects (8.6 months vs. 5.5 months).[13]

Despite consensus that referral for nutrition intervention should be early,[15] a multisite prospective study of clinical practice in Ireland found that the median time from cancer diagnosis to dietitian referral was 61 days. Moreover, by the time of referral to the dietitian, 66% of patients lost at least 5% body weight in the previous 3 to 6 months (36% of patients had at least 10% weight loss in the same time period). Considering weight loss history, patient clinical status, and known prior contacts with health care providers, dietitians determined that 45% of patients studied had “earlier opportunities for referral.”[16]

#### Behavioral strategies for symptom management

Cancer and cancer treatment result in a range of side effects, described as nutrition impact symptoms, that impede oral intake. While some patients experience few of these effects, others may have multiple symptoms, including:

- Anorexia.
- Early satiety.
- Constipation.
- Diarrhea.
- Dysphagia.
- Fatigue.
- Mucositis.
- Nausea.
- Taste and smell changes.
- Xerostomia.

These symptoms can result in a decline in nutrition status and quality of life. Behavioral strategies are essential for alleviating the impact of these symptoms and promoting adequate nutrient intake; pharmacologic interventions may be used in combination with these strategies to minimize symptom severity.

The following lists describe behavioral strategies to help alleviate nutrition-related symptoms of cancer treatment. The information is based on the National Cancer Institute’s (NCI’s) Eating Hints: Before, During, and After Cancer Treatment (https://www.cancer.gov/publications/patient-education/eating-hints) and AICR’s Dealing With Treatment Side Effects (https://www.aicr.org/cancer-survival/treatment-tips/during-treatment/). Additional information about nutrition strategies during treatment is available from oncology-focused organizations such as ACS and AICR.[4,5,17]

- Loss of Appetite and Weight Loss
  - Eat small, frequent meals and healthy snacks throughout the day.
  - Eat foods that are high in protein and calories.
  - Eat high-protein foods first in your meal while your appetite is strongest—foods such as beans, chicken, fish, meat, yogurt, and eggs.
  - Add extra protein and calories to food. Cook with protein-fortified milk.
  - Drink milkshakes, smoothies, juices, or soups if you do not feel like eating solid foods.
  - Prepare and store small portions of favorite foods.
  - Seek foods that appeal to the sense of smell.
  - Experiment with different foods.
  - Eat larger meals when you feel well and are rested.
  - Sip only small amounts of liquids during meals.
  - Eat your largest meal when you feel hungriest, whether at breakfast, lunch, or dinner.
  - Be as active as possible to help develop a bigger appetite.
  - Consider asking your health practitioner about blenderized drinks with a high nutrient density.
  - Tell your doctor if you have eating problems such as nausea, vomiting, or changes in how foods taste and smell.
  - Perform frequent mouth care to relieve symptoms and decrease aftertastes.
  - Consider tube feedings if you are unable to sustain a certain amount of caloric intake to maintain strength.
- Constipation
  - Drink plenty of fluids each day, including water, warm juices, and prune juice.
  - Be active each day; take walks regularly.
  - Eat more fiber-containing foods.
  - Drink hot liquids to help relieve constipation, including coffee, tea, and warm milk.
  - Talk with your doctor before taking laxatives, stool softeners, or any medicine to relieve constipation.
  - Limit certain foods if you develop gas, including broccoli, cabbage, cauliflower, beans, and cucumbers.
  - Eat a large breakfast, including a hot drink and high-fiber foods.
  - Consider a fiber supplement.
- Diarrhea
  - Drink plenty of fluids to replace those lost from diarrhea, including water, ginger ale, and sports drinks.
  - Let carbonated drinks lose their fizz before you drink them.
  - Eat foods and liquids that are high in sodium and potassium.
    - Liquids: bouillon or fat-free broth.
    - Foods: bananas; canned apricots; and baked, boiled, or mashed potatoes.
  - Eat low-fiber foods.
  - Have foods and drinks at room temperature (neither too hot nor too cold).
  - Avoid foods such as:
    - High-fiber foods.
    - High-sugar foods.
    - Very hot or cold drinks.
    - Greasy, fatty, and fried foods.
    - Foods that can cause gas, such as carbonated beverages, cruciferous vegetables, legumes and lentils, and chewing gum.
    - Milk products (unless low lactose or lactose free).
    - Alcohol.
    - Spicy foods.
    - Caffeinated drinks.
    - Sugar-free products sweetened with xylitol or sorbitol.
- Dry Mouth
  - Sip water throughout the day.
  - Have very sweet or tart foods and drinks, such as lemonade, to help make more saliva.
  - Chew gum or suck on hard candy, ice pops, or ice chips; sugar free is best, but consult your doctor if you also have diarrhea.
  - Eat foods that are easy to swallow.
  - Moisten food with sauce, gravy, or salad dressing.
  - Do not drink any type of alcohol, beer, or wine.
  - Avoid foods that can hurt your mouth (i.e., spicy, sour, salty, hard, or crunchy foods).
  - Keep your lips moist with lip balm.
  - Rinse your mouth every 1 to 2 hours.
  - Do not use mouthwash that contains alcohol.
  - Do not use tobacco products, and avoid secondhand smoke.
  - Talk with your doctor or dentist about artificial saliva or other products to coat, protect, and moisten your throat and mouth.
- Lactose Intolerance
  - Prepare your own low-lactose or lactose-free foods.
  - Choose lactose-free or low-lactose milk products. Most grocery stores carry products (such as milk and ice cream) labeled “lactose free” or “low lactose.”
  - Try products made with soy or rice (such as soy or rice milk and frozen desserts). These products do not contain any lactose.
  - Choose milk products that are low in lactose. Hard cheeses (such as cheddar) and yogurt are less likely to cause problems.
  - Try using lactase tablets when consuming dairy products. Lactase is an enzyme that breaks down lactose.
  - Avoid only the milk products that give you problems. Try small portions of milk, yogurt, or cheese to see if you can tolerate them.
  - Try calcium-fortified nondairy drinks and foods, which you can identify by food labels.
  - Eat more calcium-rich vegetables, including broccoli and greens.
- Nausea
  - Eat bland, soft, easy-to-digest foods rather than heavy meals.
  - Eat dry foods such as crackers, breadsticks, or toast throughout the day.
  - Eat foods that are easy on your stomach: white toast, plain yogurt, and clear broth.
  - Avoid strong food and drink smells.
  - Avoid eating in a room that has cooking odors or is overly warm; keep the living space comfortable but well ventilated.
  - Sit up or recline with your head raised for 1 hour after eating.
  - Rinse your mouth before and after eating.
  - Suck on hard candies such as peppermints or lemon drops if your mouth has a bad taste.
  - Eat five or six small meals each day instead of three large meals.
  - Do not skip meals and snacks; for many people, having an empty stomach makes nausea worse.
  - Choose foods that appeal to you. Do not force yourself to eat any food that makes you feel sick. Do not eat your favorite foods, to avoid linking them to being sick.
  - Have liquids throughout the day and drink slowly.
  - Sip only small amounts of liquids during meals because many people feel full or bloated if they eat and drink at the same time.
  - Have foods that are neither too hot nor too cold.
  - Eat dry toast or crackers before getting out of bed if you have nausea in the morning.
  - Plan the best times for you to eat and drink.
  - Relax before each cancer treatment.
  - Wear clothes that are loose and comfortable.
  - Keep a record of when you feel nausea and why.
  - Talk with your doctor about the use of antinausea medications.
- Sore Mouth
  - Choose foods that are easy to chew (i.e., soft foods such as milkshakes, scrambled eggs, and custards).
  - Cook foods until they are soft and tender.
  - Cut food into small pieces and use a blender or food processor to puree foods.
  - Drink with a straw to help push the drinks beyond the painful parts of your mouth.
  - Use a very small spoon to help you take smaller bites, which may be easier to chew.
  - Eat cold or room-temperature foods to avoid hurting your mouth with food that is too hot.
  - Suck on ice chips to help numb and soothe your mouth.
  - Avoid certain foods and drinks when your mouth is sore, such as:
    - Citrus foods.
    - Spicy foods.
    - Tomatoes and ketchup.
    - Salty foods.
    - Raw vegetables.
    - Sharp, crunchy foods.
    - Drinks that contain alcohol.
  - Do not use tobacco products.
  - Visit a dentist at least 2 weeks before starting biological therapy, chemotherapy, or radiation therapy to the head or neck.
  - Rinse your mouth 3 to 4 times a day. Mix ¼ teaspoon baking soda, ⅛ teaspoon salt, and 1 cup warm water for a mouth rinse.
  - Check your mouth each day for sores, white patches, or puffy and red areas.
  - Avoid items that can hurt or burn your mouth, such as:
    - Mouthwash containing alcohol.
    - Toothpicks or other sharp objects.
    - Tobacco products.
    - Alcohol.
- Sore Throat and Trouble Swallowing
  - Eat five or six small meals each day instead of three large meals.
  - Choose foods that are easy to swallow (e.g., milkshakes, scrambled eggs, and cooked cereal).
  - Choose foods and drinks that are high in protein and calories.
  - Cook foods until they are soft and tender.
  - Cut food into small pieces; use a blender or food processor to puree foods.
  - Moisten and soften foods with gravy, sauces, broth, or yogurt.
  - Sip drinks through a straw to make them easier to swallow.
  - Do not eat or drink things that can burn or scrape your throat, such as:
    - Hot foods and drinks.
    - Spicy foods.
    - Foods and juices that are high in acid.
    - Sharp or crunchy foods.
    - Drinks that contain alcohol.
  - Sit upright and bend your head slightly forward when eating or drinking, and stay upright for at least 30 minutes after eating.
  - Do not use tobacco products.
  - Consider tube feedings if your inability to eat is severely affecting your strength.
- Taste Changes
  - Use plastic utensils, and do not drink directly from metal containers if foods taste metallic.
  - Substitute poultry, fish, eggs, and cheese for red meat.
  - Consult a vegetarian or Chinese cookbook for useful nonmeat, high-protein recipes.
  - Add spices and sauces to foods; marinate foods.
  - Eat meat with something sweet, such as cranberry sauce, jelly, or applesauce.
  - Try tart foods and drinks.
  - Try to eat your favorite foods, if you are not nauseated. Try new foods when feeling your best.
  - If tastes are dull but not unpleasant, chew food longer to allow more contact with taste receptors.
  - If smells are an issue, keep foods covered, use cups with lids, drink through a straw, use a kitchen fan when cooking, or cook outdoors.
  - Use sugar-free lemon drops, gum, or mints when experiencing a metallic or bitter taste in the mouth. Use special mouthwashes.
  - Visit your dentist and maintain good oral hygiene.
- Vomiting
  - Do not eat or drink until vomiting stops.
  - Drink small amounts of clear liquids after vomiting stops.
  - Once you can drink clear liquids without vomiting, try full-liquid foods and drinks or those that are easy on your stomach.
  - Eat five or six small meals each day instead of three large meals.
  - Ask your doctor to prescribe medicine to prevent or control vomiting (antiemetic or antinausea medicines).
  - Sit upright and bend forward after vomiting.
- Weight Gain
  - Eat lots of fruits and vegetables, which are high in fiber and low in calories.
  - Eat foods that are high in fiber, such as whole-grain breads, cereals, and pasta.
  - Choose lean meats such as lean beef, pork trimmed of fat, or poultry without skin.
  - Choose low-fat milk products.
  - Eat less fat; limit amounts of butter, mayonnaise, desserts, fried foods, and other high-calorie foods.
  - Cook with low-fat methods such as broiling, steaming, grilling, or roasting.
  - Eat small portion sizes.
  - Eat less salt. Limiting salt will help you not retain water if your weight gain results from water retention.
  - Exercise daily.
  - Talk with your doctor before going on a diet to lose weight.
  - Pay attention to portion sizes; check food labels and the serving sizes listed.
  - Include and savor foods that you enjoy most so you feel satisfied.
  - Eat only when hungry. Consider psychological counseling or medications if you find yourself eating to address feelings of stress, fear, or depression, and try to find alternatives to eating out of boredom.

#### Oral nutrition supplements

Commercially available oral nutrition supplements (e.g., Boost, Ensure) are often used to improve the adequacy of nutrient intake.[8] These medical food products are not intended to serve as the sole source of nutrition, but to supplement energy, protein, fat, carbohydrate, and/or fiber intake, and also contribute to vitamin and mineral intake.[1] Recommendations for oral nutrition supplements are based on assessment of a patient’s nutrition status, nutrient needs, GI function, clinical condition, diet, food preferences, comorbid conditions, and resources.

Patients with cancer need adequate protein to maintain and rebuild lean body mass. A systematic review of multinutrient, high-protein oral nutrition supplements found significant improvement in total energy and protein intake and reduced incidence of complications.[18] Specialized products are also available for use in clinical conditions requiring diet modifications. Research related to oral nutrition supplements and cancer patients has primarily focused on products containing fish oil/omega-3 fatty acids.[19-21] A systematic review of 38 studies did not find evidence to support a benefit of fish oil (supplements or enriched oral nutrition drinks) for the treatment of cachexia in advanced cancer.[22] A randomized trial evaluated the perioperative use of an oral nutrition drink enriched with eicosapentaenoic acid (EPA) (fish oil). In patients with resectable gastric cancer, supplementation did not change postoperative weight loss or complication rates.[23]

Although supplements containing fish oil alone do not seem to be beneficial in cachexia or surgery recovery, studies of immune-enhancing (IE) formulas containing fish oil, as well as arginine and nucleotides, suggest benefit for individuals undergoing GI surgery. A 2012 Cochrane review found significant reduction in postoperative complications and infections when IE oral supplements or enteral feeding were given before GI surgery.[24] A 2015 Bayesian network meta-analysis of randomized controlled trials also demonstrated reduction in postoperative infectious complications when IE formulas were used preoperatively. Studies of both preoperative and postoperative use found that noninfectious complications and hospital length of stay were also reduced.[25]

There is concern that long-term use of oral nutrition supplements can result in taste fatigue and decreased compliance with recommendations. A systematic review of compliance with oral nutrition supplements suggested that compliance is good, especially with higher-energy-density supplements.[26] Weaknesses of the review were that compliance was not the primary outcome variable of most of the evaluated studies, the analysis involved mean results from groups of subjects rather than individual compliance, and only 11% of the studies involved patients with cancer.

When oral supplements do not achieve nutrition goals, enteral and/or parenteral nutrition can be considered in the context of a patient’s nutrition status and the overall medical treatment plan.[15,27]

#### Nutrition support

Nutrition support is the delivery of nutrition that bypasses oral intake. Every measure is employed to sustain patients and improve their condition through oral intake before nutrition support is considered.

- Enteral nutrition (tube feeding) provides nutrition directly into the GI tract.
- Parenteral nutrition is the intravenous (IV) infusion of nutrients.

The use of enteral and parenteral nutrition in the oncology population may be indicated when oral nutrition strategies are not possible or fail because of tumor location or severe side effects. Although nutrition support is not recommended as standard treatment, it may be beneficial for patients who are malnourished and expected to become unable to take in adequate nutrition by mouth for an extended period of time.[15,27] There are concerns that use of nutrition support will stimulate tumor growth and metastasis, but studies in humans are limited and show mixed results. However, if nutrition support is clinically indicated, it should not be withheld because of concerns about tumor promotion.[27,28]

Enteral nutrition is preferred over parenteral nutrition in most instances. Enteral nutrition continues to use the gut, is associated with fewer infectious complications, is often easier to administer, and is more cost-effective than parenteral nutrition.[27-29] Parenteral nutrition is indicated for patients with a malfunctioning GI tract, malabsorptive conditions, mechanical obstructions, severe bleeding, severe diarrhea, intractable vomiting, GI fistulas in locations difficult to bypass with an enteral tube, or inflammatory bowel processes such as prolonged ileus and severe enterocolitis.[28,29]

Indications for nutrition support include the following:[27,30]

- Patient is moderately to severely malnourished, will undergo major surgery, and is anticipated to not achieve adequate oral nutrition for at least 7 to 14 days postsurgery.
- Patient is malnourished and anticipated to have inadequate ingestion or absorption for 7 to 14 days or longer.
- Patient has a mechanical obstruction preventing food from reaching the small bowel for proper digestion and absorption.

Providing nutrition support routinely to patients undergoing chemotherapy or radiation therapy is not recommended; rather, nutrition support is reserved for patients who meet any of the criteria listed above. It is sometimes difficult to know which patients will have a prolonged period of inadequate oral intake or malabsorption and will benefit from nutrition support.[30] For patients undergoing head and neck radiation, investigators have validated an evidenced-based protocol for determining which patients are at high risk of nutrition deficiency and proactive placement of a gastrostomy tube.[31,32]

Although aggressive nutrition support has been shown to improve quality of life in patients with advanced cancer,[33] it is generally not recommended if life expectancy is less than a few weeks.[27] For some patients who have incurable disease and are undergoing anticancer treatment—such as those with bowel obstruction—nutrition support may be appropriate.[33] Practice guidelines are available from multinational groups, including the European Society for Clinical Nutrition and Metabolism (ESPEN) and the Multinational Association of Supportive Care in Cancer (MASCC). These guidelines endorse the use of nutrition support for individuals with advanced cancer who cannot ingest or absorb sufficient nutrients if their prognosis is more than 1 month, they are interested, and they have adequate cognitive and physical abilities.[34][Level of evidence: IV]

Potential benefits of nutrition support include the following:

- Improved quality of life.
- Decreased risk of death due to malnutrition.
- Decreased physical, cognitive, and psychological problems.

Investigators have suggested the following additional criteria for withholding nutrition support in patients with advanced disease:[33]

- Short estimated life expectancy (fewer than 2–3 months).
- Poor performance status as determined by a Karnofsky Performance Status score lower than 50% [35] or an Eastern Cooperative Oncology Group Performance Status grade of 3 or 4.[36]
- Severe organ dysfunction.
- Uncontrolled symptoms.
- Patient choice.

##### Enteral route and administration

Several effective methods for the delivery of enteral nutrition exist. Factors affecting a choice of the enteral route include the following:

- Anticipated length of need.
- Aspiration risk.
- Tumor location.
- Side effects.

Assessment of need is best performed early. If a malnourished patient requires surgery for an unrelated event, a feeding tube may be placed at that time to avoid an additional procedure.

###### Short-term feeding

For short-term feeding (<2 weeks), a nasoenteric tube may be best. The risk of aspiration is considered in the determination of the proper termination point of the tube, as follows:

- Stomach (nasogastric tube).
- Duodenum (nasoduodenal tube).
- Jejunum (nasojejunal tube). This is used for patients with an aspiration risk.

Tubes are constructed of silicone or polyurethane and can vary in length from 30 to 43 inches, with the shorter tubes used for nasogastric feedings. Diameters range from 5F catheters to 16F catheters. Tubes may have weighted tips to help passage through the gut. If a patient with cancer is at very high risk of aspiration, enteral nutrition may be contraindicated, and parenteral nutrition can be considered. Immunocompromised patients with mucositis, esophagitis, and/or herpetic, fungal, or candidiasis lesions in the mouth or throat may not be able to tolerate the presence of a nasoenteric tube.[28]

###### Longer-term feeding

For longer-term feeding (>4 weeks), direct enteral access is recommended. Percutaneous tubes may be placed endoscopically, surgically, or with fluoroscopy by interventional radiology.

Percutaneous tube placement has a number of advantages, including the following:[28]

- The diameter of the tube may be larger (15F–24F catheters), allowing easier and faster passage of formulas and medications.
- The risk of aspiration is lower because the tube is less likely to migrate into the esophagus.
- The risk of sinusitis or naso-esophageal erosion is lower.
- This route is more convenient and aesthetically pleasing to patients because they can conceal the tube.

Conversion to a skin-level button gastrostomy or jejunostomy may also be considered when longer-term support is anticipated.[28]

###### Infusion methods and formulas

Administration methods vary depending on where in the GI tract the tube terminates and may be affected by treatment side effects.

For tubes terminating in the stomach, a bolus or intermittent (gravity) drip may be possible and is preferable because it mimics normal feeding, requires less time and equipment, and offers greater flexibility to the patient. For tubes terminating in the duodenum or jejunum, an infusion pump is required because a slower administration rate is necessary. Feedings via a pump may be administered cyclically (<24 hours per day) or continuously.[28]

The following lists summarize infusion methods and considerations for initiation and administration of enteral nutrition.[28]

Bolus and Intermittent Feeding
- Caloric/nutrient and free-water requirements need to be determined to plan the feeding schedule.
- Bolus feedings can be offered 3 to 6 times each day; as much as 250 to 500 cc can be given over 10 to 15 minutes.
- Bolus feeding should be used only when the endpoint of the tube is in the stomach; it should never be used when feedings are delivered into the duodenum or jejunum. This precaution protects against gastric distention and dumping.
- A gravity drip from a bag or syringe with a slow push can be used to administer the formula.
- Diarrhea is a common side effect of this infusion method but can be controlled with a change in formula, additions to the formula, and a change in the amount of formula given over a finite period of time.

Continuous or Cyclic Drip Feeding
- Caloric/nutrient and free-water requirements need to be determined first to plan rate and time recommendations.
- Enteral feeding pumps provide reliable, constant infusion rates and decrease the risk of gastric retention.
- When no compounding factors are present, feeding into the stomach (25–30 cc/h) can start at a higher rate than feeding into the jejunum (10 cc/h); rates can be increased, with tolerance, every 4 to 6 hours until the rate reaches that needed to deliver the required caloric/nutrient needs.
- Continuous feeds can be cycled to run at night to allow greater flexibility and comfort. If it is physically possible, these nocturnal feeds can allow daytime oral or bolus feedings to meet nutrition goals and provide a more normal lifestyle.

Enteral formulas vary in nutrient composition and source. Most commercially available formulas are lactose free, kosher, and halal. Standard/polymeric formulations are appropriate for most patients. Semi-elemental and elemental formulas are available for patients with malabsorption who do not or will not tolerate standard formulas. In some cases, disease-specific (renal, pulmonary, and diabetic) formulas may be appropriate but in general are not necessary unless the patient has a demonstrated “failure” with standard formulas.

The use of whole-food blenderized formulas is gaining in popularity. Some products are commercially available, and there are published recipes for home-made formula. It is important for a dietitian to thoroughly review the nutrient content of these home-blenderized formulas to ensure adequacy.[28]

For patients in the perioperative setting, evidence supports the use of IE formulas. The most widely studied formula in this category contains a combination of arginine, omega-3 fatty acids, and nucleotides.[27,30] Studies suggest that use of these formulas for a very short time can reduce the incidence of surgical complications (infectious and noninfectious) and decrease the length of hospital stays.[24,27,37]

##### Parenteral route and administration

If parenteral nutrition is determined to be beneficial and appropriate, it can be administered via central or peripheral venous access. Many patients with cancer already have central IV catheters to accommodate multiple IV therapies. For patients who do not already have central line access or will not have it for a period of time, a peripheral catheter can be placed; however, care must be taken to avoid overuse of the peripheral IVs, as this can result in vessel sclerosis. To minimize venous complications, the use of peripheral parenteral nutrition is limited.[28]

Parenteral nutrition is a combination of dextrose (carbohydrate), amino acids (protein), and lipid emulsions (fat) with added electrolytes, vitamins, and trace elements. It is recommended that parenteral nutrition management include clinicians with expertise in nutrition support and be made up of a multidisciplinary team, including a registered dietitian and clinical pharmacist.[38]

Parenteral nutrition is typically initiated as a 24-hour infusion. After tolerance is established and generally after daily macronutrient goals are achieved, parenteral nutrition may be cycled (typically to an infusion time of 10–14 hours). For patients who will receive home parenteral nutrition, a cyclic infusion is preferred.[28] It is generally recommended that parenteral nutrition be initiated in the hospital and not at home. Only if the benefits of home initiation far outweigh the risks should it be considered, and only for patients who are hemodynamically stable, at low risk of refeeding syndrome, and nondiabetic.[39]

#### Pharmaceutical management of cancer-associated cachexia and weight loss

Many treatments have been suggested for cachexia-anorexia syndrome (CAS), but few of these treatments have resulted in consistent improvement, probably because of the multifactorial mechanisms involved.[40-42] Treatment must both reverse the metabolic disturbances in carbohydrate, lipid, and protein metabolism and treat the associated decrease in caloric intake.[43] Although most studies have examined single agents targeting one part of the multifactorial issues associated with CAS, many investigators have suggested that a multidrug approach might be more beneficial.[43-45] A summary of selected agents can be found in Table 6.

##### Appetite stimulants

The first widely studied treatment issue has been anorexia associated with CAS. The use of agents that improve appetite and resultant caloric intake have been widely studied; these agents include corticosteroids, progesterone analogues, androgens, cannabinoids, and cyproheptadine.

###### Corticosteroids

Perhaps the earliest agents studied for the management of cancer cachexia are dexamethasone and prednisolone. Used in cancer treatment for their anti-inflammatory, antimalignancy, and antiemetic properties, steroids have produced side effects such as increased appetite and weight gain, probably because of their effects on the hypothalamus.

Several large placebo-controlled studies have shown increases in appetite and weight gain associated with steroid use in this setting.[46] However, the palliative effects on CAS have typically been short lived, and prolonged use is associated with significant side effects such as furthering catabolic effects on muscle, myopathy, joint disease, hyperglycemia, and hypertension.[47,48]

###### Progesterone analogues

Like steroids, progesterone antagonists are effective in improving appetite and weight in patients with AIDS-related cachexia and CAS.[49,50] A Cochrane review of 38 trials involving 4,304 patients reported the use of megestrol at doses of 160 to 800 mg per day for the treatment of CAS.[51] The only consistent benefits seen were weight gain and improved appetite. No definitive conclusions about other outcomes related to lean body mass, quality of life, or fatigue could be drawn. No improvement in survival was found.[51] In some clinical trials, the improvement was shown to be temporary increases in fat and water mass without concomitant improvements in lean body mass or quality of life.[52,53] However, another trial showed statistically significant improvements in weight, quality of life (as measured by the European Organisation for Research and Treatment of Cancer Quality of Life Questionnaire Core 30), appetite, and grip strength at 1- and 2-month intervals, compared with baseline.[54] In contrast, a 2022 meta-analysis of eight trials providing sufficient anthropometric data in the evaluation of megestrol in cancer-related anorexia concluded that megestrol acetate did not provide symptomatic improvement of anorexia/cachexia in patients with advanced cancer.[55] The overall pooled mean change in weight was 0.75 kg (95% confidence interval, -1.64 to 3.15).

A placebo-controlled study looked at megestrol acetate at a dose of 7.5 mg/kg per day in 26 children with weight loss exceeding 5%. The megestrol group had a mean weight gain of 19.7% compared with weight loss of 1.2% (P = .003) in the placebo group.[56] Megestrol has also been studied in prophylaxis of weight loss, but again there was no demonstrated improvement in quality of life, lean muscle mass, or survival.[57-59] Concerns have also been raised about a possible increase in thromboembolic phenomena, sex hormone dysregulation, and suppression of the hypothalamic-pituitary axis, resulting in symptomatic adrenal insufficiency.[60]

###### Cannabinoids

Interest in the use of cannabinoids in CAS is ongoing because of their effects on appetite and potential benefit in HIV-related cachexia.[61] However, in a study of 469 patients comparing dronabinol alone versus megestrol acetate alone versus dronabinol plus megestrol acetate, dronabinol was inferior to megestrol acetate, and there was no additive effect when the drugs were used together.[62] A similar European trial of 243 patients comparing dronabinol with placebo also found no benefit.[63] For more information, see Cannabis and Cannabinoids.

###### Cyproheptadine

Cyproheptadine is a serotonin and histamine antagonist developed as an antihistamine. Side effects include increased appetite and weight gain.[64] A number of studies, mostly in children with a wide range of disorders associated with anorexia and weight loss, have shown that cyproheptadine results in significant improvements in weight in a number of studies.[65-67]

In a study of cyproheptadine use in children with CAS, one group of investigators evaluated 66 children with weight loss exceeding 5%.[66] The children received cyproheptadine at a daily dosage of 0.25 mg/kg. A total of 76% of the patients were classified as responders, experiencing either weight gain or no further weight loss. Patients also showed a significant increase in serum leptin levels.[66] Leptin is a protein hormone produced by adipocytes and is associated with body mass, particularly body fat. An increase in serum leptin has been correlated with an increase in body mass index.[66]

##### Anti-inflammatory agents

CAS is a multifactorial disorder that occurs in more than 50% of patients with advanced cancer. Increases in cytokines associated with cancer—including tumor necrosis factor-alpha (TNF-alpha), interleukin-6 (IL-6), and interleukin-1—have been shown to be important in the etiology of this disorder.[68] Pharmaceutical agents that inhibit the cytokine increases seen with cancer have been studied in patients with CAS.[69-71] EPA, an omega-3 fatty acid found in fish oil, has been used in a number of trials.[72] However, a meta-analysis failed to show a consistent improvement in CAS.[22] Similarly, several literature reviews of studies using nonsteroidal anti-inflammatory agents have failed to show conclusive evidence of efficacy.[73,74]

Specific targeted agents have also been studied. These include agents targeting TNF-alpha, such as etanercept, infliximab, and pentoxifylline, which, in small trials, have not had a significant impact.[75]

Several studies using thalidomide, a nonspecific antagonist to TNF, have been performed.[76-80] Thalidomide is of interest as a treatment for CAS because of its immunomodulatory properties.[77] A single-center, double-blind trial randomly assigned 50 pancreatic cancer patients who had lost at least 10% of their body weight to receive thalidomide 200 mg or placebo for 24 weeks. Patients who took thalidomide had a statistically significant reduction in weight loss compared with those who took a placebo.[79] A similarly sized trial of thalidomide 100 mg demonstrated no significant treatment effect.[77] Additionally, a Cochrane review on this topic reported insufficient evidence to support the use of thalidomide in patients with advanced cancer.[81]

##### Olanzapine

Olanzapine is an antipsychotic that blocks multiple neurotransmitters, including dopamine, serotonin, catecholamines, acetylcholine, and histamine.[82] Side effects of increased appetite and weight gain have been investigated in CAS with varying degrees of success. A single-center dose escalation trial evaluated the effect of olanzapine 2.5 mg to 20 mg daily on CAS and metabolic cytokines in 31 patients with advanced cancer receiving antineoplastic treatments.[83] A nonsignificant trend in attenuation of weight loss did not correlate with changes in metabolic cytokines. In contrast, a retrospective review evaluated food intake 3 days before and after initiation of olanzapine in 80 cancer patients hospitalized due to anorexia.[84] The average dose of olanzapine was 2.28 mg, which resulted in an increase in average relative food intake of 149%. Interestingly, olanzapine increased food intake by 143% in the cohort of patients who did not have preexisting nausea/vomiting.

A prospective trial randomly assigned 124 patients starting chemotherapy for untreated, locally advanced, or metastatic gastric, hepatopancreaticobiliary, and lung cancers to receive olanzapine 2.5 mg daily or placebo to evaluate appetite stimulation and weight gain.[85] At baseline, one-third of patients were underweight, almost all had anorexia, and over half reported greater than 5% weight loss from their prediagnosis weight. After 12 weeks, a greater proportion of patients in the olanzapine group versus the placebo group achieved more than 5% weight gain (60% vs. 9%, respectively). The olanzapine group also experienced a statistically significant improvement in appetite using a visual analog scale (43% vs. 13%, P < .001). The fraction of patients with grade 3 or greater adverse effects was lower with olanzapine than placebo (12% vs. 37%, P = .002), which resulted in the ability to increase chemotherapy to full dose in 12 of 16 patients.

Table 6. Commonly Prescribed Medications for Cachexia-Anorexia Syndrome^a^

Drug | Dose | Comments | Benefit in Appetite, Cachexia, or Both | Reference/Level of Evidence
Progestational agents
Megestrol acetate | 160–800 mg daily (most-common dose: 400 or 800 mg) | Doses >160 mg/d associated with better weight gain; 800 mg may be optimal. More benefit seen than with dronabinol in comparative study. Addition of thalidomide to megestrol increased benefit. | Appetite and cachexia | [62][Level of evidence: I]; [57][Level of evidence: I][87]
Medroxyprogesterone | 500 mg bid | Notable for a VTE-related death. | Both | [58][Level of evidence: I]
Glucocorticoids
Dexamethasone | 0.75 mg qid | Benefit similar to that seen with megestrol with increased toxicity. | Both | [88][Level of evidence: I]
Methylprednisolone | 16 mg bid | Small trial (N = 40). | Appetite | [48][Level of evidence: I]
Prednisolone | 5 mg tid | | Appetite | [89][Level of evidence: I]
Antihistamines
Cyproheptadine | 2 mg qid, maximum 16 daily | Has been used up to 24 mg daily. | Adults: appetite; children: both | [64][Level of evidence: I]; [66][Level of evidence: II]; [65][Level of evidence: II]
Antidepressants/antipsychotics
Olanzapine | 2.5–20 mg daily | Effects on cachexia-anorexia syndrome may be more significant in patients with concomitant nausea or vomiting. | Both | [83][Level of evidence: II]; [84,85]

bid = twice a day; qid = 4 times a day; tid = 3 times a day; VTE = venous thromboembolism.

^a^Adapted from Lexicomp Online [86] and other references.

##### Combination therapy

Given the multifactorial etiology of and multiple mechanisms involved in the development of CAS, it is possible that combining agents with different mechanisms of action might result in greater efficacy.[90,91] In one study, 332 patients diagnosed with CAS were randomly assigned to one of five treatment arms: medroxyprogesterone alone, oral supplementation with EPA, L-carnitine, thalidomide, or a combination of all four agents.[80] Investigators looked at lean body mass, resting energy expenditure, and fatigue. In this study, the combination arm was found to be superior. Another trial used megestrol alone versus megestrol plus L-carnitine, celecoxib, and antioxidants to treat 104 women with gynecologic malignancies.[90] Again, the combination arm was found to be superior. Conversely, a randomized placebo-controlled trial of megestrol acetate and placebo versus megestrol acetate and celecoxib found no significant difference in weight gain, quality of life, appetite score, or grip strength between the two groups. However, both groups showed improvements, suggesting a benefit of the single-agent use of megestrol acetate.[54]

Researchers also looked at the combination of formoterol, an anabolic beta-2 adrenergic agonist, and megestrol acetate in 13 patients. Six of seven evaluable patients achieved a major response, with increases in muscle mass.[49] Conversely, another study looking at megestrol plus meloxicam versus meloxicam plus EPA versus megestrol plus meloxicam and EPA showed no advantage to the three-drug regimen.[92] However, such combinations also may result in increased cumulative toxicity. For these reasons, there is no recommended combination at this time. In addition, combining drug therapy with nutrition support and increased physical activity may have even greater efficacy.

##### Summary of pharmaceutical treatment strategies

CAS is a complex, multifactorial complication of cancer and its therapy, resulting in weight loss and decreased lean body mass. As understanding of the mechanisms of CAS improves and new agents that selectively target proposed pathways become available, more efficacious treatments are expected to become available. Trials of new agents must be able to compare similar groups of patients. In addition, treating preventively in high-risk patients, as opposed to treating patients already experiencing CAS, may have better outcomes. Further clinical trials are essential to determine the best possible therapies.

### References

Grant BL: Academy of Nutrition and Dietetics Pocket Guide to the Nutrition Care Process and Cancer. Academy of Nutrition and Dietetics, 2015.
Hamilton C, Boyce VJ: Addressing malnutrition in hospitalized adults. JPEN J Parenter Enteral Nutr 37 (6): 808-15, 2013.23969410
White JV, Guenter P, Jensen G, et al.: Consensus statement: Academy of Nutrition and Dietetics and American Society for Parenteral and Enteral Nutrition: characteristics recommended for the identification and documentation of adult malnutrition (undernutrition). JPEN J Parenter Enteral Nutr 36 (3): 275-83, 2012.22535923
Kushi LH, Doyle C, McCullough M, et al.: American Cancer Society Guidelines on nutrition and physical activity for cancer prevention: reducing the risk of cancer with healthy food choices and physical activity. CA Cancer J Clin 62 (1): 30-67, 2012 Jan-Feb.22237782
World Cancer Research Fund International: Cancer Prevention Recommendations. London, England: World Cancer Research Fund International, 2024. Available online (https://www.wcrf.org/diet-activity-and-cancer/cancer-prevention-recommendations/). Last accessed May 15, 2024.
Rock CL, Doyle C, Demark-Wahnefried W, et al.: Nutrition and physical activity guidelines for cancer survivors. CA Cancer J Clin 62 (4): 243-74, 2012 Jul-Aug.22539238
Association of Community Cancer Centers: Cancer Program Guidelines. Association of Community Cancer Centers, 2012. Also available online (https://www.accc-cancer.org/docs/documents/cancer-program-fundamentals/cancer-program-guidelines-2012.pdf). Last accessed May 15, 2024.
Clinical management and supportive care services. In: Association of Community Cancer Centers: Cancer Program Guidelines. Association of Community Cancer Centers, 2012, pp 10-25.
Robien K, Bechard L, Elliott L, et al.: American Dietetic Association: Revised standards of practice and standards of professional performance for registered dietitians (generalist, specialty, and advanced) in oncology nutrition care. J Am Diet Assoc 110 (2): 310-7, 317.e1-23, 2010.20112462
Ravasco P: Nutritional approaches in cancer: relevance of individualized counseling and supplementation. Nutrition 31 (4): 603-4, 2015.25770326
Lee JL, Leong LP, Lim SL: Nutrition intervention approaches to reduce malnutrition in oncology patients: a systematic review. Support Care Cancer 24 (1): 469-80, 2016.26404858
Lu Z, Fang Y, Liu C, et al.: Early Interdisciplinary Supportive Care in Patients With Previously Untreated Metastatic Esophagogastric Cancer: A Phase III Randomized Controlled Trial. J Clin Oncol 39 (7): 748-756, 2021.33417481
Davidson W, Ash S, Capra S, et al.: Weight stabilisation is associated with improved survival duration and quality of life in unresectable pancreatic cancer. Clin Nutr 23 (2): 239-47, 2004.15030964
Alavi DT, Henriksen HB, Lauritzen PM, et al.: Effect of a one-year personalized intensive dietary intervention on body composition in colorectal cancer patients: Results from a randomized controlled trial. Clin Nutr ESPEN 57: 414-422, 2023.37739688
Arends J, Bachmann P, Baracos V, et al.: ESPEN guidelines on nutrition in cancer patients. Clin Nutr 36 (1): 11-48, 2017.27637832
Lorton CM, Griffin O, Higgins K, et al.: Late referral of cancer patients with malnutrition to dietitians: a prospective study of clinical practice. Support Care Cancer 28 (5): 2351-2360, 2020.31485981
Thompson KL, Elliott L, Fuchs-Tarlovsky V, et al.: Oncology Evidence-Based Nutrition Practice Guideline for Adults. J Acad Nutr Diet 117 (2): 297-310.e47, 2017.27436529
Cawood AL, Elia M, Stratton RJ: Systematic review and meta-analysis of the effects of high protein oral nutritional supplements. Ageing Res Rev 11 (2): 278-96, 2012.22212388
Sánchez-Lara K, Turcott JG, Juárez-Hernández E, et al.: Effects of an oral nutritional supplement containing eicosapentaenoic acid on nutritional and clinical outcomes in patients with advanced non-small cell lung cancer: randomised trial. Clin Nutr 33 (6): 1017-23, 2014.24746976
van der Meij BS, Langius JA, Smit EF, et al.: Oral nutritional supplements containing (n-3) polyunsaturated fatty acids affect the nutritional status of patients with stage III non-small cell lung cancer during multimodality treatment. J Nutr 140 (10): 1774-80, 2010.20739445
de Aguiar Pastore Silva J, Emilia de Souza Fabre M, Waitzberg DL: Omega-3 supplements for patients in chemotherapy and/or radiotherapy: A systematic review. Clin Nutr 34 (3): 359-66, 2015.25907586
Ries A, Trottenberg P, Elsner F, et al.: A systematic review on the role of fish oil for the treatment of cachexia in advanced cancer: an EPCRC cachexia guidelines project. Palliat Med 26 (4): 294-304, 2012.21865295
Ida S, Hiki N, Cho H, et al.: Randomized clinical trial comparing standard diet with perioperative oral immunonutrition in total gastrectomy for gastric cancer. Br J Surg 104 (4): 377-383, 2017.28072447
Burden S, Todd C, Hill J, et al.: Pre-operative nutrition support in patients undergoing gastrointestinal surgery. Cochrane Database Syst Rev 11: CD008879, 2012.23152265
Song GM, Tian X, Zhang L, et al.: Immunonutrition Support for Patients Undergoing Surgery for Gastrointestinal Malignancy: Preoperative, Postoperative, or Perioperative? A Bayesian Network Meta-Analysis of Randomized Controlled Trials. Medicine (Baltimore) 94 (29): e1225, 2015.26200648
Hubbard GP, Elia M, Holdoway A, et al.: A systematic review of compliance to oral nutritional supplements. Clin Nutr 31 (3): 293-312, 2012.22257636
Huhmann MB, August DA: Perioperative nutrition support in cancer patients. Nutr Clin Pract 27 (5): 586-92, 2012.22875752
Ryan A: Nutrition support in the oncology setting. In: Leser M, Ledesma N, Bergerson S, et al., eds.: Oncology Nutrition for Clinical Practice. Oncology Nutrition Dietetic Practice Group, 2018, pp 123-34.
Chow R, Bruera E, Chiu L, et al.: Enteral and parenteral nutrition in cancer patients: a systematic review and meta-analysis. Ann Palliat Med 5 (1): 30-41, 2016.26841813
August DA, Huhmann MB; American Society for Parenteral and Enteral Nutrition (A.S.P.E.N.) Board of Directors: A.S.P.E.N. clinical guidelines: nutrition support therapy during adult anticancer treatment and in hematopoietic cell transplantation. JPEN J Parenter Enteral Nutr 33 (5): 472-500, 2009 Sep-Oct.19713551
Brown TE, Crombie J, Spurgin AL, et al.: Improving guideline sensitivity and specificity for the identification of proactive gastrostomy placement in patients with head and neck cancer. Head Neck 38 (Suppl 1): E1163-71, 2016.26268152
Brown TE, Getliffe V, Banks MD, et al.: Validation of an updated evidence-based protocol for proactive gastrostomy tube insertion in patients with head and neck cancer. Eur J Clin Nutr 70 (5): 574-81, 2016.26862007
Cotogni P: Enteral versus parenteral nutrition in cancer patients: evidences and controversies. Ann Palliat Med 5 (1): 42-9, 2016.26841814
Alderman B, Allan L, Amano K, et al.: Multinational Association of Supportive Care in Cancer (MASCC) expert opinion/guidance on the use of clinically assisted nutrition in patients with advanced cancer. Support Care Cancer 30 (4): 2983-2992, 2022.34665311
Karnofsky DA, Abelmann WH, Craver LF, et al.: The use of the nitrogen mustards in the palliative treatment of carcinoma: with particular reference to bronchogenic carcinoma. Cancer 1 (4): 634-56, 1948.
Oken MM, Creech RH, Tormey DC, et al.: Toxicity and response criteria of the Eastern Cooperative Oncology Group. Am J Clin Oncol 5 (6): 649-55, 1982.7165009
Drover JW, Dhaliwal R, Weitzel L, et al.: Perioperative use of arginine-supplemented diets: a systematic review of the evidence. J Am Coll Surg 212 (3): 385-99, 399.e1, 2011.21247782
Ayers P, Adams S, Boullata J, et al.: A.S.P.E.N. parenteral nutrition safety consensus recommendations. JPEN J Parenter Enteral Nutr 38 (3): 296-333, 2014 Mar-Apr.24280129
Durfee SM, Adams SC, Arthur E, et al.: A.S.P.E.N. Standards for Nutrition Support: Home and Alternate Site Care. Nutr Clin Pract 29 (4): 542-555, 2014.24964788
Molfino A, Formiconi A, Rossi Fanelli F, et al.: Cancer cachexia: towards integrated therapeutic interventions. Expert Opin Biol Ther 14 (10): 1379-81, 2014.25017968
Mondello P, Mian M, Aloisi C, et al.: Cancer cachexia syndrome: pathogenesis, diagnosis, and new therapeutic options. Nutr Cancer 67 (1): 12-26, 2015.25513730
von Haehling S, Anker SD: Treatment of cachexia: an overview of recent developments. J Am Med Dir Assoc 15 (12): 866-72, 2014.25455531
Dingemans AM, de Vos-Geelen J, Langen R, et al.: Phase II drugs that are currently in development for the treatment of cachexia. Expert Opin Investig Drugs 23 (12): 1655-69, 2014.25056249
Ma JD, Heavey SF, Revta C, et al.: Novel investigational biologics for the treatment of cancer cachexia. Expert Opin Biol Ther 14 (8): 1113-20, 2014.24707881
Tuca A, Jimenez-Fonseca P, Gascón P: Clinical evaluation and optimal management of cancer cachexia. Crit Rev Oncol Hematol 88 (3): 625-36, 2013.23953794
Kumar NB, Kazi A, Smith T, et al.: Cancer cachexia: traditional therapies and novel molecular mechanism-based approaches to treatment. Curr Treat Options Oncol 11 (3-4): 107-17, 2010.21128029
Moertel CG, Schutt AJ, Reitemeier RJ, et al.: Corticosteroid therapy of preterminal gastrointestinal cancer. Cancer 33 (6): 1607-9, 1974.4135151
Bruera E, Roca E, Cedaro L, et al.: Action of oral methylprednisolone in terminal cancer patients: a prospective randomized double-blind study. Cancer Treat Rep 69 (7-8): 751-4, 1985 Jul-Aug.2410117
Greig CA, Johns N, Gray C, et al.: Phase I/II trial of formoterol fumarate combined with megestrol acetate in cachectic patients with advanced malignancy. Support Care Cancer 22 (5): 1269-75, 2014.24389826
Hong S, Jeong IG, You D, et al.: Safety of megestrol acetate in palliating anorexia-cachexia syndrome in patients with castration-resistant prostate cancer. J Korean Med Sci 28 (5): 687-92, 2013.23678259
Ruiz-García V, López-Briz E, Carbonell-Sanchis R, et al.: Megestrol acetate for cachexia-anorexia syndrome. A systematic review. J Cachexia Sarcopenia Muscle 9 (3): 444-452, 2018.29542279
Malone M: Medications associated with weight gain. Ann Pharmacother 39 (12): 2046-55, 2005.16278256
Busquets S, Serpe R, Sirisi S, et al.: Megestrol acetate: its impact on muscle protein metabolism supports its use in cancer cachexia. Clin Nutr 29 (6): 733-7, 2010.20621398
Kouchaki B, Janbabai G, Alipour A, et al.: Randomized double-blind clinical trial of combined treatment with megestrol acetate plus celecoxib versus megestrol acetate alone in cachexia-anorexia syndrome induced by GI cancers. Support Care Cancer 26 (7): 2479-2489, 2018.29442239
Lim YL, Teoh SE, Yaow CYL, et al.: A Systematic Review and Meta-Analysis of the Clinical Use of Megestrol Acetate for Cancer-Related Anorexia/Cachexia. J Clin Med 11 (13): , 2022.35807039
Cuvelier GD, Baker TJ, Peddie EF, et al.: A randomized, double-blind, placebo-controlled clinical trial of megestrol acetate as an appetite stimulant in children with weight loss due to cancer and/or cancer therapy. Pediatr Blood Cancer 61 (4): 672-9, 2014.24167059
Wen HS, Li X, Cao YZ, et al.: Clinical studies on the treatment of cancer cachexia with megestrol acetate plus thalidomide. Chemotherapy 58 (6): 461-7, 2012.23406994
Simons JP, Aaronson NK, Vansteenkiste JF, et al.: Effects of medroxyprogesterone acetate on appetite, weight, and quality of life in advanced-stage non-hormone-sensitive cancer: a placebo-controlled multicenter study. J Clin Oncol 14 (4): 1077-84, 1996.8648360
Argilés JM, Anguera A, Stemmler B: A new look at an old drug for the treatment of cancer cachexia: megestrol acetate. Clin Nutr 32 (3): 319-24, 2013.23395103
Baracos VE: Clinical trials of cancer cachexia therapy, now and hereafter. J Clin Oncol 31 (10): 1257-8, 2013.23439747
Gorter R: Management of anorexia-cachexia associated with cancer and HIV infection. Oncology (Williston Park) 5 (9 Suppl): 13-7, 1991.1721521
Jatoi A, Windschitl HE, Loprinzi CL, et al.: Dronabinol versus megestrol acetate versus combination therapy for cancer-associated anorexia: a North Central Cancer Treatment Group study. J Clin Oncol 20 (2): 567-73, 2002.11786587 21646473
Strasser F, Luftner D, Possinger K, et al.: Comparison of orally administered cannabis extract and delta-9-tetrahydrocannabinol in treating patients with cancer-related anorexia-cachexia syndrome: a multicenter, phase III, randomized, double-blind, placebo-controlled clinical trial from the Cannabis-In-Cachexia-Study-Group. J Clin Oncol 24 (21): 3394-400, 2006.16849753
Kardinal CG, Loprinzi CL, Schaid DJ, et al.: A controlled trial of cyproheptadine in cancer patients with anorexia and/or cachexia. Cancer 65 (12): 2657-62, 1990.2187585
Moertel CG, Kvols LK, Rubin J: A study of cyproheptadine in the treatment of metastatic carcinoid tumor and the malignant carcinoid syndrome. Cancer 67 (1): 33-6, 1991.1985720
Couluris M, Mayer JL, Freyer DR, et al.: The effect of cyproheptadine hydrochloride (periactin) and megestrol acetate (megace) on weight in children with cancer/treatment-related cachexia. J Pediatr Hematol Oncol 30 (11): 791-7, 2008.18989154
Rodriguez L, Diaz J, Nurko S: Safety and efficacy of cyproheptadine for treating dyspeptic symptoms in children. J Pediatr 163 (1): 261-7, 2013.23419589
Argilés JM, Olivan M, Busquets S, et al.: Optimal management of cancer anorexia-cachexia syndrome. Cancer Manag Res 2: 27-38, 2010.21188094
Chasen M, Bhargava R, Hirschman S: Immunomodulatory agents for the treatment of cachexia. Curr Opin Support Palliat Care 8 (4): 328-33, 2014.25111255
Solheim TS, Fearon KC, Blum D, et al.: Non-steroidal anti-inflammatory treatment in cancer cachexia: a systematic literature review. Acta Oncol 52 (1): 6-17, 2013.23020528
Palus S, von Haehling S, Flach VC, et al.: Simvastatin reduces wasting and improves cardiac function as well as outcome in experimental cancer cachexia. Int J Cardiol 168 (4): 3412-8, 2013.23680591
Di Girolamo FG, Situlin R, Mazzucco S, et al.: Omega-3 fatty acids and protein metabolism: enhancement of anabolic interventions for sarcopenia. Curr Opin Clin Nutr Metab Care 17 (2): 145-50, 2014.24500439
Christoffersen T: Cancer, cachexia, prostanoids, and NSAIDs. Acta Oncol 52 (1): 3-5, 2013.23244759
Reid J, Hughes CM, Murray LJ, et al.: Non-steroidal anti-inflammatory drugs for the treatment of cancer cachexia: a systematic review. Palliat Med 27 (4): 295-303, 2013.22450159
Gueta I, Altman A, Shoenfeld Y: [The effect of blocking TNF-alpha in patients with cancer-related cachexia and anorexia]. Harefuah 149 (8): 512-4, 551, 550, 2010.21341430
Tassinari D, Santelmo C, Tombesi P, et al.: Thalidomide in the treatment of cancer cachexia. J Palliat Care 24 (3): 187-9, 2008.18942570
Yennurajalingam S, Willey JS, Palmer JL, et al.: The role of thalidomide and placebo for the treatment of cancer-related anorexia-cachexia symptoms: results of a double-blind placebo-controlled randomized study. J Palliat Med 15 (10): 1059-64, 2012.22880820
Davis M, Lasheen W, Walsh D, et al.: A Phase II dose titration study of thalidomide for cancer-associated anorexia. J Pain Symptom Manage 43 (1): 78-86, 2012.21640548
Gordon JN, Trebble TM, Ellis RD, et al.: Thalidomide in the treatment of cancer cachexia: a randomised placebo controlled trial. Gut 54 (4): 540-5, 2005.15753541
Mantovani G, Macciò A, Madeddu C, et al.: Randomized phase III clinical trial of five different arms of treatment in 332 patients with cancer cachexia. Oncologist 15 (2): 200-11, 2010.20156909
Reid J, Mills M, Cantwell M, et al.: Thalidomide for managing cancer cachexia. Cochrane Database Syst Rev (4): CD008664, 2012.22513961
Bymaster FP, Falcone JF, Bauzon D, et al.: Potent antagonism of 5-HT(3) and 5-HT(6) receptors by olanzapine. Eur J Pharmacol 430 (2-3): 341-9, 2001.11711053
Naing A, Dalal S, Abdelrahim M, et al.: Olanzapine for cachexia in patients with advanced cancer: an exploratory study of effects on weight and metabolic cytokines. Support Care Cancer 23 (9): 2649-54, 2015.25680763
Okamoto H, Shono K, Nozaki-Taguchi N: Low-dose of olanzapine has ameliorating effects on cancer-related anorexia. Cancer Manag Res 11: 2233-2239, 2019.30962712
Sandhya L, Devi Sreenivasan N, Goenka L, et al.: Randomized Double-Blind Placebo-Controlled Study of Olanzapine for Chemotherapy-Related Anorexia in Patients With Locally Advanced or Metastatic Gastric, Hepatopancreaticobiliary, and Lung Cancer. J Clin Oncol 41 (14): 2617-2627, 2023.36977285
Lexicomp Online. Hudson, Ohio: Lexi-Comp, Inc., 2025. Available online with subscription (https://www.wolterskluwer.com/en/solutions/uptodate/enterprise/lexidrug). Last accessed Jan. 15, 2025.
Ruiz Garcia V, López-Briz E, Carbonell Sanchis R, et al.: Megestrol acetate for treatment of anorexia-cachexia syndrome. Cochrane Database Syst Rev (3): CD004310, 2013.23543530
Loprinzi CL, Kugler JW, Sloan JA, et al.: Randomized comparison of megestrol acetate versus dexamethasone versus fluoxymesterone for the treatment of cancer anorexia/cachexia. J Clin Oncol 17 (10): 3299-306, 1999.10506633
Willox JC, Corr J, Shaw J, et al.: Prednisolone as an appetite stimulant in patients with cancer. Br Med J (Clin Res Ed) 288 (6410): 27, 1984.6418303
Macciò A, Madeddu C, Gramignano G, et al.: A randomized phase III clinical trial of a combined treatment for cachexia in patients with gynecological cancers: evaluating the impact on metabolic and inflammatory profiles and quality of life. Gynecol Oncol 124 (3): 417-25, 2012.22198049
Vaughan VC, Martin P, Lewandowski PA: Cancer cachexia: impact, mechanisms and emerging treatments. J Cachexia Sarcopenia Muscle 4 (2): 95-109, 2013.23097000
Kanat O, Cubukcu E, Avci N, et al.: Comparison of three different treatment modalities in the management of cancer cachexia. Tumori 99 (2): 229-33, 2013 Mar-Apr.23748819

## Nutrition in Advanced or Terminal Cancer

Patients with advanced disease often develop new or worsening nutrition-related side effects associated with disease progression, treatment, or both. In a large systematic review of symptom prevalence in patients with incurable cancer, the most common nutrition impact symptoms were the following:[1]

- Anorexia.
- Xerostomia.
- Constipation.
- Nausea.

These symptoms were present in a large subset of patients receiving care in various settings and in a small subset of patients in their last 2 weeks of life. Other symptoms among advanced-cancer patients receiving care in inpatient palliative care units,[2,3] cancer cachexia specialty clinics,[4] hospice, or nonhospice settings [3] included the following:[1-4]

- Bloating.
- Constipation.
- Dysphagia.
- Chewing difficulties.
- Early satiety.
- Mucositis.
- Taste changes.
- Vomiting.

In addition, advanced-cancer patients with pain and opioid-induced constipation (OIC) reported both physical and psychological distress related to the OIC.[5]

Clinically refractory cachexia develops as a result of very advanced cancer or rapidly progressive disease that is unresponsive to antineoplastic therapy. It is associated with active catabolism and weight loss that is unresponsive to nutrition therapy. At the end of life, patients often have severely restricted oral intake of food and fluids as part of the normal dying process.[6,7]

The primary objective of nutrition intervention in patients with advanced cancer is to conserve or restore the best possible quality of life and control any nutrition-related symptoms that cause distress.[7] However, issues related to nutrition and hydration for patients with advanced cancer may be a source of conflict among patients and their families and between patients and their health care teams.[7] Providers may need to address the natural history of cachexia in end-stage cancer and help patients cope with the emotional implications of cancer cachexia-anorexia.[8]

### Goals of Nutrition Therapy in Advanced Cancer

Nutrition goals for a patient with advanced cancer may depend on the overall plan of care. These patients may be receiving anticancer therapy (with or without concurrent palliative care), may be receiving palliative care alone, or may be enrolled in hospice. Regardless of the care setting, patients are screened to determine the need for nutrition intervention. The Patient-Generated Subjective Global Assessment (PG-SGA) has been validated in cancer patients and addresses body weight history, food intake, symptoms, and functional status.[9,10] When palliative care is initiated early in the disease process, nutrition goals focus on supporting active treatment and aim to improve treatment outcomes, body composition, physical function, and symptom palliation.

As the focus of care shifts from cancer-modifying therapy to hospice or end-of-life care, nutrition goals may become less aggressive, with a shift toward comfort. Continued assessment and adjustment of nutrition goals and interventions is required throughout this continuum to meet the changing needs of the patient receiving palliative or hospice care services.[9]

### Nutrition Intervention in Advanced Cancer

Ethical issues may arise when patients, families, or caregivers request artificial nutrition and hydration when there is no prospect of recovering from the underlying illness or benefiting appreciably from the intervention. When there is uncertainty about whether a patient will benefit from artificial nutrition, hydration, or both, a time-limited trial with clear, measurable endpoints may be useful. The caregiving team will explain that, as with other medical therapies, artificial nutrition and hydration can be stopped if the desired nutrition effects do not occur.[11]

Randomized controlled trials of enteral or parenteral nutrition in cancer patients receiving formal palliative care are lacking.[12] On the basis of available evidence and expert consensus, clinical guidelines recommend that the use of nutrition support therapy in advanced cancer be limited to carefully selected patients.[13,14] Patients who have demonstrated a favorable response to parenteral nutrition include those with the following:[15 ,13,16]

- A good performance status, such as a Karnofsky Performance Status score higher than 50%.
- Inoperable bowel obstruction.
- Minimal symptoms from disease involving major organs.
- Indolent disease.

If patients are to benefit from parenteral nutrition, they must be physically and emotionally capable of participating in their own care and have the following:[13]

- A life expectancy longer than 40 to 60 days.
- Strong social and financial support at home, including a dedicated informal caregiver.
- Failed trials of less-invasive medical therapies such as appetite stimulants and enteral feedings.

Patients with a life expectancy shorter than 40 days may be palliated with home intravenous (IV) fluid therapy, although this practice is controversial.[13]

### Nutrition Considerations for the End of Life

Patients and caregivers often consider the provision of food and fluids to be basic care. However, the use of artificial nutrition and hydration at the end of life is a complex and controversial intervention that is influenced by clinical, cultural, religious, ethical, and legal factors. Patients and families often believe these interventions will improve quality and length of life, but evidence of clear benefit is lacking.[12,17] There are also potential burdens associated with this care, including the following:

- Sepsis (a risk of parenteral nutrition).
- Aspiration and diarrhea (a risk of tube feeding).
- Pressure sores and skin breakdown.
- Complications caused by fluid overload.

In addition, agitated or confused patients receiving artificial nutrition and hydration may need to be physically restrained to prevent them from removing a gastrostomy tube, nasogastric tube, or central IV line.[18]

Patients at the end of life who have increased difficulty with swallowing have less risk of aspiration with thick liquids than with thin liquids.[7] Thirst can often be alleviated with sips of water, ice chips, and good mouth care. In the last few days of life, the incidence of swallowing problems can be as high as 79% and include frequent coughing, anorexia, and problems with oral secretions.[19] Communication within the health care team and support of the family and caregivers is important in alleviating the distress concerning decreased food and fluid intake and in eliminating unrealistic expectations.[7]

For patients at the end of life, the goal of nutrition therapy is to alleviate symptoms rather than reverse nutrition deficits. The pleasure of tasting food and the social benefits of participating in meals with family and friends can be emphasized over increasing caloric intake.[6] A systematic review of practices and effects on cancer patients in the last week of life found no study supporting the use of artificial nutrition, and studies with artificial hydration had mixed results.[20] Studies on hydration with positive effects reported less chronic nausea and physical signs of dehydration, while studies with negative effects found more ascites and intestinal drainage. Other studies found no effect on terminal delirium, thirst, chronic nausea, or fluid overload.[20]

A well-designed randomized trial reported that hydration at 1 L/d for a week did not improve dehydration symptoms (fatigue, myoclonus, sedation, hallucinations) and provided no benefit in quality of life or survival.[21] A prospective evaluation of Japanese national guidelines for parenteral hydration at the end of life suggests little harm or benefit; however, patients expressed a high level of satisfaction and felt it was beneficial.[22] A subsequent study utilizing the Japanese guidelines reported that hydration-related symptoms (nausea, edema, dyspnea, abdominal pain/distention) were significantly improved, as were quality of life, global satisfaction, and feeling of benefit.[23]

The American Academy of Hospice and Palliative Medicine suggests that providers facilitate respectful and informed discussions about the effects of artificial nutrition and hydration near the end of life among physicians, other health care professionals, patients, and families.[11] It is incumbent on physicians and other health care providers to describe the options when the implementation, continuation, or discontinuation of artificial nutrition and hydration is being considered, and to establish goals of care with the patient and/or surrogate decision-maker. Ideally, patients will make their own decisions on the basis of a careful assessment of potential benefits and burdens, consistent with legal and ethical norms that permit patients to accept or forgo specific medical interventions.[11]

### Ethical, Cultural, and Religious Issues in Medically Assisted Nutrition and Hydration in Advanced Cancer

Decisions about whether to provide artificial nutrition and hydration to patients in the late stages of life are complex and influenced by ethical, cultural, and religious issues, as well as by legal issues, clinical considerations, and patient and family preferences. The event of death itself, the manner in which it occurs, and the patient’s quality of life are significant matters that have spiritual and psychological consequences for each person involved.[24]

A number of organizations have published guidelines on the ethical considerations about whether to forgo or discontinue hydration and nutrition support, including the following:

- American Medical Association.[25]
- American Academy of Hospice and Palliative Medicine.[11]
- Hospice and Palliative Nurses Association.[18]
- American Society for Parenteral and Enteral Nutrition.[26,27]
- Academy of Nutrition and Dietetics.[28]

These guidelines reflect judicial decisions that have supported the authority and liberty of the competent individual to refuse life-saving hydration and nutrition, the role of medical expertise, and respect for the dignity and values of the patient and family. For more information, see the sections on Artificial Hydration and Artificial Nutrition in Last Days of Life.

Religion and religious traditions provide a set of core beliefs about life events and an ethical foundation for clinical decision-making.[24] Although the fundamental principles of major religions provide perspectives on death and dying, decisions related to artificial nutrition and hydration remain complicated, varying even within the same major religion or faith tradition.

To provide an optimal and inclusive healing environment, all palliative team members need to be aware of their own spirituality and how it may differ from that of fellow team members and the patients and families they serve.[29] Clinical practice guidelines established by the National Consensus Project for Quality Palliative Care address spiritual, religious, and existential aspects of care.[30] One group of researchers [24] has provided insight into the principles and perspectives held by Roman Catholic, Jewish, Buddhist, and Islamic faith traditions. Another group [31] has provided an extensive analysis of how world religions formulate ethical decisions related to withdrawing treatment and determining when death has occurred.

Religious beliefs are often closely related to cultural views. Individuals living in the midst of a particular tradition can continue to be influenced by it, even if they have stopped believing in or practicing it.[31] In some cultures, individual autonomy is not the prevailing or predominant principle; some Asian, American Indian/Alaska Native, and Hispanic cultures favor family or community autonomy.[26] Distinguishing between majority and minority cultures is important. Patients may rely on religion and spirituality as important means to interpret and cope with illness.[32]

Religious and cultural preferences about artificial nutrition and hydration are expressions of a patient’s autonomy and, in many cases, may outweigh clinical considerations. When these values conflict with clinical judgment, practitioners may work with the patient and/or surrogate in consulting with faith leaders and the patient's ethnic community, as well as the institutional ethics committee, to facilitate resolution.[26,27]

### References

Teunissen SC, Wesker W, Kruitwagen C, et al.: Symptom prevalence in patients with incurable cancer: a systematic review. J Pain Symptom Manage 34 (1): 94-104, 2007.17509812
Bovio G, Montagna G, Bariani C, et al.: Upper gastrointestinal symptoms in patients with advanced cancer: relationship to nutritional and performance status. Support Care Cancer 17 (10): 1317-24, 2009.19199106
Mercadante S, Aielli F, Adile C, et al.: Prevalence of oral mucositis, dry mouth, and dysphagia in advanced cancer patients. Support Care Cancer 23 (11): 3249-55, 2015.25832897
Del Fabbro E, Hui D, Dalal S, et al.: Clinical outcomes and contributors to weight loss in a cancer cachexia clinic. J Palliat Med 14 (9): 1004-8, 2011.21793729
Dhingra L, Shuk E, Grossman B, et al.: A qualitative study to explore psychological distress and illness burden associated with opioid-induced constipation in cancer patients with advanced disease. Palliat Med 27 (5): 447-56, 2013.22707180
Dev R, Hui D, Chisholm G, et al.: Hypermetabolism and symptom burden in advanced cancer patients evaluated in a cachexia clinic. J Cachexia Sarcopenia Muscle 6 (1): 95-8, 2015.26136416
Orrevall Y: Nutritional support at the end of life. Nutrition 31 (4): 615-6, 2015.25770331
Hopkinson JB: The emotional aspects of cancer anorexia. Curr Opin Support Palliat Care 4 (4): 254-8, 2010.20881500
Trentham K: Nutrition management of oncology patients in palliative and hospice settings. In: Leser M, Ledesma N, Bergerson S, et al., eds.: Oncology Nutrition for Clinical Practice. Oncology Nutrition Dietetic Practice Group, 2018, pp 241-8.
Nutrition screening and determining malnutrition risk in adults with cancer. In: Grant BL: Academy of Nutrition and Dietetics Pocket Guide to the Nutrition Care Process and Cancer. Academy of Nutrition and Dietetics, 2015, pp 15-27.
Statement on Artificial Nutrition and Hydration Near the End of Life. American Academy of Hospice and Palliative Medicine, 2013. Available online (https://aahpm.org/advocacy/where-we-stand/anh/). Last accessed Jan. 24, 2025.
Good P, Richard R, Syrmis W, et al.: Medically assisted nutrition for adult palliative care patients. Cochrane Database Syst Rev (4): CD006274, 2014.24760679
August DA, Huhmann MB; American Society for Parenteral and Enteral Nutrition (A.S.P.E.N.) Board of Directors: A.S.P.E.N. clinical guidelines: nutrition support therapy during adult anticancer treatment and in hematopoietic cell transplantation. JPEN J Parenter Enteral Nutr 33 (5): 472-500, 2009 Sep-Oct.19713551
Bozzetti F, Arends J, Lundholm K, et al.: ESPEN Guidelines on Parenteral Nutrition: non-surgical oncology. Clin Nutr 28 (4): 445-54, 2009.19477052
Karnofsky DA, Abelmann WH, Craver LF, et al.: The use of the nitrogen mustards in the palliative treatment of carcinoma: with particular reference to bronchogenic carcinoma. Cancer 1 (4): 634-56, 1948.
Soo I, Gramlich L: Use of parenteral nutrition in patients with advanced cancer. Appl Physiol Nutr Metab 33 (1): 102-6, 2008.18347659
Good P, Richard R, Syrmis W, et al.: Medically assisted hydration for adult palliative care patients. Cochrane Database Syst Rev (4): CD006273, 2014.24760678
HPNA position statement: artificial nutrition and hydration in advanced illness. J Hosp Palliat Nurs 14 (3): 173-6, 2012.
Bogaardt H, Veerbeek L, Kelly K, et al.: Swallowing problems at the end of the palliative phase: incidence and severity in 164 unsedated patients. Dysphagia 30 (2): 145-51, 2015.25533181
Raijmakers NJ, van Zuylen L, Costantini M, et al.: Artificial nutrition and hydration in the last week of life in cancer patients. A systematic literature review of practices and effects. Ann Oncol 22 (7): 1478-86, 2011.21199887
Bruera E, Hui D, Dalal S, et al.: Parenteral hydration in patients with advanced cancer: a multicenter, double-blind, placebo-controlled randomized trial. J Clin Oncol 31 (1): 111-8, 2013.23169523
Yamaguchi T, Morita T, Shinjo T, et al.: Effect of parenteral hydration therapy based on the Japanese national clinical guideline on quality of life, discomfort, and symptom intensity in patients with advanced cancer. J Pain Symptom Manage 43 (6): 1001-12, 2012.22651946
Nakajima N, Takahashi Y, Ishitani K: The volume of hydration in terminally ill cancer patients with hydration-related symptoms: a prospective study. J Palliat Med 17 (9): 1037-41, 2014.25050699
Jahn Kassim PN, Alias F: Religious, Ethical and Legal Considerations in End-of-Life Issues: Fundamental Requisites for Medical Decision Making. J Relig Health 55 (1): 119-34, 2016.25576401
AMA Code of Medical Ethics’ Opinions on Care at the End of Life. Opinion 2.20 - Withholding or Withdrawing Life-Sustaining Medical Treatment. Virtual Mentor 13 (12): 1038-40, 2013. Also available online (https://journalofethics.ama-assn.org/article/ama-code-medical-ethics-opinions-care-end-life/2013-12). Last accessed May 15, 2024.
Geppert CM, Andrews MR, Druyan ME: Ethical issues in artificial nutrition and hydration: a review. JPEN J Parenter Enteral Nutr 34 (1): 79-88, 2010 Jan-Feb.19897766
Barrocas A, Geppert C, Durfee SM, et al.: A.S.P.E.N. ethics position paper. Nutr Clin Pract 25 (6): 672-9, 2010.21051546
O'Sullivan Maillet J, Baird Schwartz D, Posthauer ME, et al.: Position of the academy of nutrition and dietetics: ethical and legal issues in feeding and hydration. J Acad Nutr Diet 113 (6): 828-33, 2013.23684296
Ferrell B, Otis-Green S, Economou D: Spirituality in cancer care at the end of life. Cancer J 19 (5): 431-7, 2013 Sep-Oct.24051617
National Consensus Project for Quality Palliative Care: Clinical Practice Guidelines for Quality Palliative Care. 4th ed. National Coalition for Hospice and Palliative Care, 2018. Also available online. (https://www.nationalcoalitionhpc.org/wp-content/uploads/2020/07/NCHPC-NCPGuidelines_4thED_web_FINAL.pdf)Last accessed Jan. 24, 2025.
Setta SM, Shemie SD: An explanation and analysis of how world religions formulate their ethical decisions on withdrawing treatment and determining death. Philos Ethics Humanit Med 10: 6, 2015.25890378
El Nawawi NM, Balboni MJ, Balboni TA: Palliative care and spiritual care: the crucial role of spiritual care in the care of patients with advanced illness. Curr Opin Support Palliat Care 6 (2): 269-74, 2012.22469668

## Reducing Risk of Foodborne Illness in Cancer Patients

The wide range of practices related to neutropenic diets reflects the lack of evidence regarding the efficacy of dietary restrictions in preventing infectious complications in cancer patients. Studies evaluating various approaches to diet restrictions have not shown clear benefit.

A meta-analysis and a systematic review of articles evaluating the effect of a neutropenic diet on infection and mortality rates in cancer patients found no superiority or advantage in using a neutropenic diet over a regular diet in neutropenic cancer patients.[1,2] Four studies were identified in the meta-analysis, one observational study and three randomized controlled trials, including 918 patients with cancer or stem cell transplant. Even after the observational study was omitted from the analysis, the results persisted.[1] The systematic review identified only three randomized controlled trials,[3-5] which compared different diets in 192 children and adults. The review concluded that these individual studies provided no evidence showing that the use of a low-bacterial diet prevents infections.[2]

Other studies have demonstrated potential adverse effects of neutropenic diets. One group of investigators [6] conducted a retrospective review of 726 patients who had undergone hematopoietic cell transplant (HCT). The 363 patients who received the neutropenic diet experienced significantly more documented infections than did the 363 patients receiving the general hospital diet, which permitted black pepper and well-washed fruits and vegetables and excluded raw tomatoes, seeds, and nuts. The difference in infection rates was especially evident after the resolution of neutropenia (P < .008). The neutropenic diet group had a significantly higher rate of infections that could be attributed to a gastrointestinal source, as well as a trend toward a higher rate of vancomycin-resistant enterococci infections.[6]

Without clinical evidence to define the dietary restrictions required to prevent foodborne infection in immunocompromised cancer patients, recommendations for food safety are based on general food safety guidelines and the avoidance of foods most likely to contain pathogenic organisms. The effectiveness of these guidelines depends on patient and caregiver knowledge about, and adherence to, safe food handling practices and avoidance of higher-risk foods. Leading cancer centers provide guidelines for HCT patients and information about food safety practices related to food purchase, storage, and preparation (e.g., the University of Pittsburgh Medical Center’s ​Stem Cell Transplant Diet (https://www.upmc.com/-/media/upmc/patients-visitors/education/unique-pdfs/stemcelltransdiet.pdf) and Memorial Sloan Kettering Cancer Center’s Neutropenic Diet (https://mskcc.org/experience/patient-support/nutrition-cancer/diet-plans-cancer/neutropenic-diet)). Patients can be referred to FoodSafety.gov for up-to-date information about food recalls and alerts.

Recommendations support the use of safe food-handling procedures and avoiding consumption of foods that pose a high risk of infection, as noted in Table 7.

Table 7. Dietary Considerations to Prevent Foodborne Infection^a^

Food Group | May Eat | Do Not Eat
Dairy | All pasteurized grade “A” milk, milk products | Unpasteurized or raw milk
Dairy | Dry, refrigerated, or frozen pasteurized whipped topping | Foods made from unpasteurized or raw milk
Dairy | Commercially packaged hard and semisoft cheeses such as cheddar, mozzarella, Parmesan, Swiss, Monterey Jack | Cheeses from delicatessens
Dairy | Cooked soft cheese such as brie, Camembert, feta, farmer’s^b^ | Cheese containing chili peppers or other uncooked vegetables
Dairy | Commercially sterile ready-to-feed and liquid-concentrate infant formulas | Cheeses with molds, such as blue, Stilton
Dairy | Commercially sterile ready-to-feed and liquid-concentrate infant formulas | Mexican-style soft cheeses such as queso fresco, queso blanco
Dairy | Commercially sterile ready-to-feed and liquid-concentrate infant formulas | Powdered infant formulas, if a ready-to-feed or liquid-concentrate alternative is available
Meat and meat substitutes | All meats, poultry, fish cooked to well-done (poultry >180°F; other meats >160°F) | Raw or undercooked meat, poultry, fish, game, tofu
Meat and meat substitutes | Canned meats | Raw or undercooked (over easy, soft boiled, poached) eggs and unpasteurized egg substitutes
Meat and meat substitutes | Eggs cooked until both white and yolk are firm | Meats & cold cuts from delicatessens
Meat and meat substitutes | Pasteurized eggs and egg substitutes and powdered egg white (can be used undercooked) | Hard-cured salami in natural wrap
Meat and meat substitutes | Commercially packaged salami, bologna, hot dogs, ham, other lunch meats (heated until steaming) | Refrigerated pâtés or meat spreads
Meat and meat substitutes | Canned and shelf-stable smoked fish (refrigerate after opening) | Uncooked, refrigerated smoked seafood such as salmon or trout labeled nova-style, lox, kippered, smoked, or jerky
Meat and meat substitutes | Pasteurized or cooked tofu | Pickled fish
Meat and meat substitutes | Refrigerated smoked seafood such as salmon or trout if cooked to 160°F or contained in a cooked dish or casserole | Tempe (tempeh) products
Fruits and nuts | Well-washed^c^, raw, and frozen fruit, except berries | Unwashed raw fruits
Fruits and nuts | Cooked, canned, and frozen fruit | Fresh or frozen berries
Fruits and nuts | Pasteurized juices and frozen juice concentrates | Unpasteurized fruit and vegetable juices
Fruits and nuts | Dried fruits | Fresh fruit salsa and unpasteurized raw-fruit–containing items found in grocery refrigerated case
Fruits and nuts | Canned or bottled roasted nuts | Raw nuts
Fruits and nuts | Shelled, roasted nuts and nuts in baked products | Roasted nuts in the shell
Fruits and nuts | Commercially packaged nut butters (peanut, almond, soy nut) | Roasted nuts in the shell
Entrees and soups | All cooked entrees and soups | All miso products
Vegetables | Well-washed^c^ raw and frozen vegetables | Unwashed raw vegetables or herbs
Vegetables | All cooked fresh, frozen, or canned vegetables, including potatoes | Fresh, unpasteurized vegetable salsa and unpasteurized raw-vegetable–containing items found in grocery refrigerated case
Vegetables | Shelf-stable^d^ bottled salsa (refrigerate after opening) | All raw vegetable sprouts (alfalfa, clover, mung bean)
Vegetables | Cooked vegetable sprouts such as mung bean sprouts | Salads from delicatessens
Vegetables | Fresh, well-washed^c^ herbs, dried herbs, and spices (added to raw or cooked foods) | Salads from delicatessens
Breads, grains, and cereal products | All breads, bagels, rolls, English muffins, muffins, pancakes, sweet rolls, waffles, French toast | Raw (not baked or cooked) grain products, such as raw oats
Breads, grains, and cereal products | Potato chips, corn chips, tortilla chips, pretzels, popcorn | Raw (not baked or cooked) grain products, such as raw oats
Breads, grains, and cereal products | Cooked grains and grain products, including pasta and rice | Raw (not baked or cooked) grain products, such as raw oats
Breads, grains, and cereal products | All cereals, cooked and ready-to-eat | Raw (not baked or cooked) grain products, such as raw oats
Beverages | Boiled well water^e^ | Unboiled well water
Beverages | Tap water and ice made from tap water^f^ | Cold-brewed tea made with warm or cold water
Beverages | Commercially bottled distilled, spring, and natural waters^g^ | Mate tea
Beverages | All canned, bottled, and powdered beverages | Wine, unpasteurized beer (Note: all alcoholic beverages can be consumed if approved by physician.)
Beverages | Instant and brewed coffee and tea; cold-brewed tea made with boiling water | Unpasteurized fruit and vegetable juices
Beverages | Herbal teas brewed from commercially packaged tea bags | Powdered infant formulas, if a ready-to-feed or liquid-concentrate alternative is available
Beverages | Commercial nutrition supplements, both liquid and powdered | Powdered infant formulas, if a ready-to-feed or liquid-concentrate alternative is available
Beverages | Commercially sterile ready-to-feed and liquid-concentrate infant formulas | Powdered infant formulas, if a ready-to-feed or liquid-concentrate alternative is available
Desserts | Refrigerated commercial and homemade cakes, pies, pastries, and puddings | Unrefrigerated cream-filled pasty products (not shelf-stable^d^)
Desserts | Refrigerated cream-filled pastries | Unrefrigerated cream-filled pasty products (not shelf-stable^d^)
Desserts | Cookies, both homemade and commercially prepared | Unrefrigerated cream-filled pasty products (not shelf-stable^d^)
Desserts | Shelf-stable^d^ cream-filled cupcakes and fruit pies | Unrefrigerated cream-filled pasty products (not shelf-stable^d^)
Desserts | Canned and refrigerated puddings | Unrefrigerated cream-filled pasty products (not shelf-stable^d^)
Desserts | Ices, ice pops, and similar products | Unrefrigerated cream-filled pasty products (not shelf-stable^d^)
Desserts | Candy, gum | Unrefrigerated cream-filled pasty products (not shelf-stable^d^)
Fats | Vegetable oils and shortening | Fresh salad dressings (stored in grocery refrigerated case) containing raw eggs or cheeses listed as “Do Not Eat” under “Dairy”
Fats | Refrigerated lard, margarine, and butter | Fresh salad dressings (stored in grocery refrigerated case) containing raw eggs or cheeses listed as “Do Not Eat” under “Dairy”
Fats | Commercial, shelf-stable^d^ mayonnaise and salad dressings, including blue cheese and other cheese-based salad dressings (refrigerate after opening) | Fresh salad dressings (stored in grocery refrigerated case) containing raw eggs or cheeses listed as “Do Not Eat” under “Dairy”
Fats | Cooked gravies and sauces | Fresh salad dressings (stored in grocery refrigerated case) containing raw eggs or cheeses listed as “Do Not Eat” under “Dairy”
Other | Commercial pasteurized grade “A” honey | Raw honey, honey in the comb
Other | Salt, granulated sugar, brown sugar | Herb and nutrient supplement preparations
Other | Jams, jellies, syrups (refrigerate after opening) | Brewer’s yeast, if uncooked
Other | Catsup, mustard, barbecue sauce, soy sauce, other condiments (refrigerate after opening) | Brewer’s yeast, if uncooked
Other | Pickles, pickle relish, olives (refrigerate after opening) | Brewer’s yeast, if uncooked
Other | Vinegar | Brewer’s yeast, if uncooked

^a^Adapted from Tomblyn et al.[7] and Lund.[8]

^b^Although eating cooked soft cheese is not completely risk free, the risk of foodborne illness is low.

^c^Rinse under clean running water before use, including produce that is to be cooked or peeled, such as bananas, oranges, and melons.

^d^Shelf stable refers to unopened canned, bottled, or packaged food products that can be stored at room temperature before being opened; container may require refrigeration after being opened.

^e^Bring tap water to a rolling boil and boil for 15–20 minutes. Store boiled water in the refrigerator; discard unused water after 48 hours. Hematopoietic cell transplant patients are advised not to use well water from private wells or from public wells in communities with limited populations because tests for bacterial contamination are performed too infrequently.

^f^Tap water from a city water service in a highly populated area that is tested >2 times/day for bacterial contamination. Listen for media alerts for a “boil water advisory,” which means all tap water should be boiled >1 minute before being consumed. In addition, use a home water filter capable of removing particles >1 µm in diameter or filter by reverse osmosis to reduce risk of exposure to Cryptosporidium.

^g^Bottled water can be used if it conforms to U.S. Food and Drug Administration standards and has been processed to remove Cryptosporidium by reverse osmosis, distillation, or 1-μm-particulate absolute filtration. Contact the bottler directly to confirm which process is used.

### References

Sonbol MB, Firwana B, Diab M, et al.: The Effect of a Neutropenic Diet on Infection and Mortality Rates in Cancer Patients: A Meta-Analysis. Nutr Cancer 67 (8): 1230-8, 2015.26400721
van Dalen EC, Mank A, Leclercq E, et al.: Low bacterial diet versus control diet to prevent infection in cancer patients treated with chemotherapy causing episodes of neutropenia. Cochrane Database Syst Rev (9): CD006247, 2012.22972091
van Tiel F, Harbers MM, Terporten PH, et al.: Normal hospital and low-bacterial diet in patients with cytopenia after intensive chemotherapy for hematological malignancy: a study of safety. Ann Oncol 18 (6): 1080-4, 2007.17369599
Moody K, Finlay J, Mancuso C, et al.: Feasibility and safety of a pilot randomized trial of infection rate: neutropenic diet versus standard food safety guidelines. J Pediatr Hematol Oncol 28 (3): 126-33, 2006.16679934
Gardner A, Mattiuzzi G, Faderl S, et al.: Randomized comparison of cooked and noncooked diets in patients undergoing remission induction therapy for acute myeloid leukemia. J Clin Oncol 26 (35): 5684-8, 2008.18955453
Trifilio S, Helenowski I, Giel M, et al.: Questioning the role of a neutropenic diet following hematopoetic stem cell transplantation. Biol Blood Marrow Transplant 18 (9): 1385-90, 2012.22430084
Tomblyn M, Chiller T, Einsele H, et al.: Guidelines for preventing infectious complications among hematopoietic cell transplantation recipients: a global perspective. Biol Blood Marrow Transplant 15 (10): 1143-238, 2009.19747629
Lund BM: Microbiological food safety and a low-microbial diet to protect vulnerable people. Foodborne Pathog Dis 11 (6): 413-24, 2014.24621274

## Nutrition Trends in Cancer

### Special Diets

Maintaining adequate nutrition while undergoing treatment for cancer is imperative because it can reduce treatment-related side effects, prevent delays in treatment, and help maintain quality of life.[1] However, many patients view their diet as a way to enhance treatment effectiveness, minimize treatment-related toxicities, or target the cancer itself, often by following a specific diet with supposed cancer-fighting benefits or by taking dietary supplements. Patients are likely to search the internet and other lay sources of information for dietary approaches to manage cancer risk and to improve prognosis. Unfortunately, much of this information is not supported by a sufficient evidence base.

However, some notable evidence-based information exists. For example, the Southwest Oncology Group conducted the Diet, Exercise, Lifestyle, and Cancer Prognosis study. Through self-reported questionnaires, the researchers evaluated dietary components and associations with chemotherapy-induced peripheral neuropathy (CIPN).[2][Level of evidence: III] The study included individuals with stage II or III invasive breast cancer (n = 900) who were treated with doxorubicin, cyclophosphamide, and filgrastim, followed by paclitaxel and pegfilgrastim. Participants completed baseline and 6-month diet and lifestyle questionnaires. Food consumption was categorized as frequency of servings per month, week, and day with small, medium, and large servings. While the amount of grains in grams was not reported, based on the frequency and size of consumption, for each increase in tertile of grain consumption, the odds ratio (OR) was 0.79 (95% confidence interval [CI], 0.66–0.94; P = .009) for decreased CIPN. Interestingly, there was a slight increase in the odds of having worse neuropathy with higher citrus fruit consumption (OR, 1.19; 95% CI, 1.01–1.40; P = .050).[2][Level of evidence: III] While further investigation is warranted, these findings are clinically informative in providing dietary guidance to this patient population.

In another study, individuals with stage I to III breast cancer (n = 9,621) enrolled in the Nurses’ Health Study and Nurses’ Health Study II were followed up for a median of 12.4 years. Data were analyzed by quintiles of low-carbohydrate diet scores based on overall, animal-rich, and plant-rich low-carbohydrate diet scores from prediagnosis, first postdiagnosis, and cumulative average postdiagnosis assessments. Quintile (Q) 5 was compared with Q1. Participants who had greater adherence to an overall low-carbohydrate diet (hazard ratio [HR], Q5 vs. Q1, 0.82; 95% CI, 0.74–0.91; P_trend_ = .0001) or a plant-rich, low-carbohydrate diet (HR, Q5 vs. Q1, 0.73; 95% CI, 0.66–0.82; P_trend_ < .0001) were at lower risk of overall mortality.[3][Level of evidence: III] Of note, there was no difference in breast cancer–specific survival among participants on these diets.

The sections below summarize the state of the science on some of the most popular diets and dietary supplements.

#### Vegetarian or vegan diet

A vegetarian diet is popular, is easy to implement, and, if followed carefully, does not result in nutritional deficiencies. There is strong evidence that a vegetarian diet reduces the incidence of many types of cancer, especially cancers of the gastrointestinal (GI) tract.[4] However, it is unknown how following a vegetarian or vegan diet can affect treatment-induced symptoms, cancer therapies, or outcomes for someone undergoing cancer therapy. There are no published clinical trials, pilot studies, or case reports on the effectiveness of a vegetarian diet for the management of cancer therapy and symptoms. There is no evidence suggesting a benefit of adopting a vegetarian or vegan diet upon diagnosis or while undergoing cancer therapy. On the other hand, there is no evidence that an individual who follows a vegetarian or vegan diet before cancer therapy should abandon it upon starting treatment.

The Men’s Eating and Living (MEAL) Study (CALGB 70807 [Alliance] (https://www.cancer.gov/clinicaltrials/NCT01238172)) was a randomized trial of men with early-stage prostate cancer. It compared participants who were managed with active surveillance and behavioral counseling with a control group who received no counseling.[5][Level of evidence: I] The study found that the intervention to increase vegetable intake was successful—there was a statistically significant increase in consumption. However, time to cancer progression did not differ between the two groups.

Potential benefits of dietary isothiocyanates (ITC), a phytochemical, were observed in the Be-Well study. Results from 1,143 participants in this study who had non–muscle-invasive bladder cancer indicated some benefits from dietary ITC consumption through cruciferous vegetables.[6][Level of evidence: II] Levels of self-reported cruciferous vegetable consumption, estimated ITC intake levels (calculated from self-reported cruciferous vegetable consumption), ITC urine metabolites levels, and plasma ITC-albumin adducts levels were analyzed in association with disease progression. Compared with having one recurrence, participants with higher raw cruciferous vegetable consumption were less likely to have two or more recurrences (OR, 0.34; 95% CI, 0.16–0.68). Participants with higher levels of plasma ITC-albumin adducts had a lower risk of disease progression, and a lower risk of progression to muscle-invasive disease was observed in participants with higher benzyl ITC levels (HR, 0.40; 95% CI, 0.17–0.93) or higher phenethyl ITC levels (HR, 0.40; 95% CI, 0.19–0.86).[6][Level of evidence: II] Further research on benefits of phytochemicals is warranted.

#### Macrobiotic diet

A macrobiotic diet varies according to a person’s sex, their level of activity, and the climate (and season) where they live, among other variables. It is a high-carbohydrate, low-fat, plant-based diet stemming from philosophical principles promoting a healthy way of living. The diet consists of 35% to 50% (by weight) whole grains, 25% to 35% vegetables, 5% to 10% soup, 5% to 10% cooked vegetables and sea vegetables, and 5% to 10% fish.

Although there are anecdotal reports of the effectiveness of a macrobiotic diet as an alternative cancer therapy, none has been published in peer-reviewed, scientific journals. No clinical trials, observational studies, or pilot studies have examined the diet as a complementary or alternative therapy for cancer. In fact, two reviews of the diet concluded that there is no scientific evidence for the use of a macrobiotic diet in cancer treatment.[7,8] Because the current research is severely lacking, recommendations for or against the diet in conjunction with standard cancer treatment cannot be made. No current clinical trials are studying the role of the macrobiotic diet in cancer therapy.

#### Ketogenic diet

A ketogenic diet has been well established as an effective alternative treatment for some cases of epilepsy and has gained popularity for use in conjunction with standard treatments for glioblastoma. The theory behind the diet as cancer treatment is that reducing glucose availability to a tumor can reduce tumor activity, and that this reduction can be achieved through entering a state of ketosis via the ketogenic diet’s increased fat intake and restriction of carbohydrates.

The ketogenic diet can be difficult to follow and relies more on exact proportions of macronutrients (typically a 4:1 ratio of fat to carbohydrates and protein) than other complementary and alternative medicine (CAM) diets.

Most studies have focused on the diet’s feasibility, tolerability, and safety, all of which have been shown for patients with glioblastoma at various stages of the disease.[9-11] Because safety and feasibility have been proven, several trials are recruiting patients to study the effectiveness of the ketogenic diet on glioblastoma. Therefore, it is safe for a patient diagnosed with glioblastoma to start a ketogenic diet if implemented properly and under the guidance of a registered dietitian.[12] However, effectiveness for symptom and disease management remains unknown.

Similarly, findings from a study that compared the acceptability and adverse effects of a ketogenic diet to the American Cancer Society's high-fiber, low-fat diet among women with ovarian or endometrial cancer found no differences between groups over 12 weeks. Further, the findings indicated that the ketogenic diet was both safe and acceptable.[13] The effectiveness for symptom and disease management for ovarian or endometrial cancer also remains unknown.

### Dietary Supplements

#### Vitamin C

For information about the use of intravenous vitamin C as a treatment for people with cancer, see Intravenous Vitamin C.

#### Probiotics

The use of probiotics has become prevalent within and outside of cancer therapy. Strong research has shown that probiotic supplementation during radiation therapy, chemotherapy, or both is well tolerated and can help prevent radiation- and chemotherapy-induced diarrhea, especially in those receiving radiation to the abdomen.[14-16] If a patient is undergoing radiation to the abdomen or receiving a chemotherapy agent with diarrhea as a common side effect, starting a probiotic supplement upon initiation of therapy could be beneficial. Evidence is also emerging for possible benefits of probiotics for immunotherapy-induced toxicities, particularly in the colon.[17]

#### Melatonin

Melatonin is a hormone produced endogenously that has been used as a CAM supplement (along with chemotherapy or radiation therapy) for targeting tumor activity and for reducing treatment-related symptoms, primarily for solid tumors.

Several studies have shown tumor response to, or disease control with, chemotherapy alongside oral melatonin, as opposed to chemotherapy alone. One study has shown tumor response with melatonin in conjunction with radiation therapy.[18-23] The combination of melatonin and chemotherapy may, in fact, increase survival time by up to 5 years compared with chemotherapy alone. However, another study did not demonstrate increased survival with melatonin, but did demonstrate improved quality of life.[24]

Melatonin taken in conjunction with chemotherapy may help reduce or prevent some treatment-related side effects and toxicities that can delay treatment, reduce doses, and negatively affect quality of life. Melatonin supplementation has been associated with significant reductions in neuropathy and neurotoxicity, myelosuppression, thrombocytopenia, cardiotoxicity, stomatitis, asthenia, and malaise.[19,20,22,25] However, one study found no benefit in taking supplemental melatonin for reducing toxicities or improving quality of life.[26]

Overall, several small studies show some evidence supporting melatonin supplementation alongside chemotherapy, radiation therapy, or both for solid tumor treatment, aiding tumor response, and reducing toxicities. Negative side effects for melatonin supplementation have not been found. Therefore, it may be appropriate to provide oral melatonin in conjunction with chemotherapy or radiation therapy to a patient with an advanced solid tumor.

#### Oral glutamine

Glutamine is an amino acid that is especially important for GI mucosal cells and their replication. Chemotherapy and radiation therapy often damage these cells, causing mucositis and diarrhea, which can lead to treatment delays and dose reductions and severely affect quality of life. Some evidence suggests that oral glutamine can reduce both of those toxicities by aiding in faster healing of the mucosal cells and entire GI tract.

For patients receiving chemotherapy who are at high risk of developing mucositis, either because of previous mucositis or having received known mucositis-causing chemotherapy, oral glutamine may reduce the severity and incidence of mucositis.[27-29]

For patients receiving radiation therapy to the abdomen, oral glutamine may reduce the severity of diarrhea and can lead to fewer treatment delays.[30,31] However, one study found no benefit to oral glutamine for preventing chemotherapy-related diarrhea.[32]

In addition to reducing GI toxicities, oral glutamine may also reduce peripheral neuropathy in patients receiving the chemotherapy agent paclitaxel.[33] Larger randomized controlled trials are needed to further determine the effectiveness of oral glutamine in treating peripheral neuropathy.

Oral glutamine is a safe, simple, and relatively low-cost supplement that may reduce severe chemotherapy- and radiation-induced toxicities.

### References

Lis CG, Gupta D, Lammersfeld CA, et al.: Role of nutritional status in predicting quality of life outcomes in cancer--a systematic review of the epidemiological literature. Nutr J 11: 27, 2012.22531478
Mongiovi JM, Zirpoli GR, Cannioto R, et al.: Associations between self-reported diet during treatment and chemotherapy-induced peripheral neuropathy in a cooperative group trial (S0221). Breast Cancer Res 20 (1): 146, 2018.30486865
Farvid MS, Spence ND, Rosner BA, et al.: Associations of low-carbohydrate diets with breast cancer survival. Cancer 129 (17): 2694-2704, 2023.37300441
Tantamango-Bartley Y, Jaceldo-Siegl K, Fan J, et al.: Vegetarian diets and the incidence of cancer in a low-risk population. Cancer Epidemiol Biomarkers Prev 22 (2): 286-94, 2013.23169929
Parsons JK, Zahrieh D, Mohler JL, et al.: Effect of a Behavioral Intervention to Increase Vegetable Consumption on Cancer Progression Among Men With Early-Stage Prostate Cancer: The MEAL Randomized Clinical Trial. JAMA 323 (2): 140-148, 2020.31935026
Wang Z, Kwan ML, Haque R, et al.: Associations of dietary isothiocyanate exposure from cruciferous vegetable consumption with recurrence and progression of non-muscle-invasive bladder cancer: findings from the Be-Well Study. Am J Clin Nutr 117 (6): 1110-1120, 2023.37044209
Lerman RH: The macrobiotic diet in chronic disease. Nutr Clin Pract 25 (6): 621-6, 2010.21139126
Kushi LH, Cunningham JE, Hebert JR, et al.: The macrobiotic diet in cancer. J Nutr 131 (11 Suppl): 3056S-64S, 2001.11694648
Rieger J, Bähr O, Maurer GD, et al.: ERGO: a pilot study of ketogenic diet in recurrent glioblastoma. Int J Oncol 44 (6): 1843-52, 2014.24728273
Champ CE, Palmer JD, Volek JS, et al.: Targeting metabolism with a ketogenic diet during the treatment of glioblastoma multiforme. J Neurooncol 117 (1): 125-31, 2014.24442482
Schmidt M, Pfetzer N, Schwab M, et al.: Effects of a ketogenic diet on the quality of life in 16 patients with advanced cancer: A pilot trial. Nutr Metab (Lond) 8 (1): 54, 2011.21794124
Kossoff EH, Zupec-Kania BA, Amark PE, et al.: Optimal clinical management of children receiving the ketogenic diet: recommendations of the International Ketogenic Diet Study Group. Epilepsia 50 (2): 304-17, 2009.18823325
Cohen CW, Fontaine KR, Arend RC, et al.: A Ketogenic Diet Is Acceptable in Women with Ovarian and Endometrial Cancer and Has No Adverse Effects on Blood Lipids: A Randomized, Controlled Trial. Nutr Cancer 72 (4): 584-594, 2020.31352797
Delia P, Sansotta G, Donato V, et al.: Use of probiotics for prevention of radiation-induced diarrhea. World J Gastroenterol 13 (6): 912-5, 2007.17352022
Chitapanarux I, Chitapanarux T, Traisathit P, et al.: Randomized controlled trial of live lactobacillus acidophilus plus bifidobacterium bifidum in prophylaxis of diarrhea during radiotherapy in cervical cancer patients. Radiat Oncol 5: 31, 2010.20444243
Osterlund P, Ruotsalainen T, Korpela R, et al.: Lactobacillus supplementation for diarrhoea related to chemotherapy of colorectal cancer: a randomised study. Br J Cancer 97 (8): 1028-34, 2007.17895895
Badgeley A, Anwar H, Modi K, et al.: Effect of probiotics and gut microbiota on anti-cancer drugs: Mechanistic perspectives. Biochim Biophys Acta Rev Cancer 1875 (1): 188494, 2021.33346129
Cerea G, Vaghi M, Ardizzoia A, et al.: Biomodulation of cancer chemotherapy for metastatic colorectal cancer: a randomized study of weekly low-dose irinotecan alone versus irinotecan plus the oncostatic pineal hormone melatonin in metastatic colorectal cancer patients progressing on 5-fluorouracil-containing combinations. Anticancer Res 23 (2C): 1951-4, 2003 Mar-Apr.12820485
Lissoni P, Barni S, Mandalà M, et al.: Decreased toxicity and increased efficacy of cancer chemotherapy using the pineal hormone melatonin in metastatic solid tumour patients with poor clinical status. Eur J Cancer 35 (12): 1688-92, 1999.10674014
Lissoni P, Chilelli M, Villa S, et al.: Five years survival in metastatic non-small cell lung cancer patients treated with chemotherapy alone or chemotherapy and melatonin: a randomized trial. J Pineal Res 35 (1): 12-5, 2003.12823608
Lissoni P, Meregalli S, Nosetto L, et al.: Increased survival time in brain glioblastomas by a radioneuroendocrine strategy with radiotherapy plus melatonin compared to radiotherapy alone. Oncology 53 (1): 43-6, 1996 Jan-Feb.8570130 96160915
Lissoni P, Paolorossi F, Ardizzoia A, et al.: A randomized study of chemotherapy with cisplatin plus etoposide versus chemoendocrine therapy with cisplatin, etoposide and the pineal hormone melatonin as a first-line treatment of advanced non-small cell lung cancer patients in a poor clinical state. J Pineal Res 23 (1): 15-9, 1997.9379341
Lissoni P, Paolorossi F, Tancini G, et al.: A phase II study of tamoxifen plus melatonin in metastatic solid tumour patients. Br J Cancer 74 (9): 1466-8, 1996.8912546
Sookprasert A, Johns NP, Phunmanee A, et al.: Melatonin in patients with cancer receiving chemotherapy: a randomized, double-blind, placebo-controlled trial. Anticancer Res 34 (12): 7327-37, 2014.25503168
Lissoni P, Tancini G, Barni S, et al.: Treatment of cancer chemotherapy-induced toxicity with the pineal hormone melatonin. Support Care Cancer 5 (2): 126-9, 1997.9069612
Del Fabbro E, Dev R, Hui D, et al.: Effects of melatonin on appetite and other symptoms in patients with advanced cancer and cachexia: a double-blind placebo-controlled trial. J Clin Oncol 31 (10): 1271-6, 2013.23439759
Anderson PM, Schroeder G, Skubitz KM: Oral glutamine reduces the duration and severity of stomatitis after cytotoxic cancer chemotherapy. Cancer 83 (7): 1433-9, 1998.9762946 98433910
Skubitz KM, Anderson PM: Oral glutamine to prevent chemotherapy induced stomatitis: a pilot study. J Lab Clin Med 127 (2): 223-8, 1996.8636652
Peterson DE, Jones JB, Petit RG: Randomized, placebo-controlled trial of Saforis for prevention and treatment of oral mucositis in breast cancer patients receiving anthracycline-based chemotherapy. Cancer 109 (2): 322-31, 2007.17154160
Kucuktulu E, Guner A, Kahraman I, et al.: The protective effects of glutamine on radiation-induced diarrhea. Support Care Cancer 21 (4): 1071-5, 2013.23064902
Rotovnik Kozjek N, Kompan L, Soeters P, et al.: Oral glutamine supplementation during preoperative radiochemotherapy in patients with rectal cancer: a randomised double blinded, placebo controlled pilot study. Clin Nutr 30 (5): 567-70, 2011.21733605
Bozzetti F, Biganzoli L, Gavazzi C, et al.: Glutamine supplementation in cancer patients receiving chemotherapy: a double-blind randomized study. Nutrition 13 (7-8): 748-51, 1997 Jul-Aug.9263281 97408762
Vahdat L, Papadopoulos K, Lange D, et al.: Reduction of paclitaxel-induced peripheral neuropathy with glutamine. Clin Cancer Res 7 (5): 1192-7, 2001.11350883

## Latest Updates to This Summary (09/20/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Goals of Nutrition Therapy

Added text about the results of a randomized controlled trial that studied 383 patients newly diagnosed with primary adenocarcinoma colorectal cancer in Oslo, Norway. An intervention group received tailored dietary counseling, discount cards for healthy foods, delivery of free food, and an invitation to attend a cooking course. A control group received no dietary intervention. At 6 months, the intervention group had a lower weight gain and fat mass gain than the control group. At both 6 and 12 months, the intervention group had a lower increase in the ratio of fat mass to fat-free mass compared with the control group (cited Alavi et al. as reference 14).

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about nutrition before, during, and after cancer treatment. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Nutrition in Cancer Care are:

- Marilyn J. Hammer, PhD, DC, RN, FAAN (Dana-Farber Cancer Institute)
- Jared R. Lowe, MD, HMDC (University of North Carolina School of Medicine)
- Maria Petzel, RD, CSO, LD, CNSC, FAND (University of TX MD Anderson Cancer Center)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Nutrition in Cancer Care. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/appetite-loss/nutrition-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389293]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).